# Multiple Endocrine Neoplasia Type 2 (MEN2) (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of MEN2. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Brief Clinical Description of Multiple Endocrine Neoplasia Type 2 (MEN2)

MEN2 is caused by pathogenic variants in the RET gene. MEN2 is distinct from two similarly named syndromes, Multiple Endocrine Neoplasia Type 1 (MEN1) and Multiple Endocrine Neoplasia Type 4 (MEN4). The endocrine disorders observed in MEN2 are medullary thyroid cancer (MTC); its precursor, C-cell hyperplasia (CCH) (referred to as C-cell neoplasia or C-cell carcinoma in situ in more recent publications)[1]; pheochromocytoma (PHEO); and parathyroid adenomas and/or hyperplasia. MEN2-associated MTC is often bilateral and/or multifocal and arises in the background of CCH. In contrast, sporadic MTC is typically unilateral and/or unifocal. Because approximately 75% to 80% of sporadic cases also have associated CCH, this histopathologic feature cannot be used as a predictor of familial disease.[2] Metastatic spread of MTC to regional lymph nodes (i.e., perithyroidal, paratracheal, jugular chain, and upper mediastinum) or to distant sites, such as the liver, is common in patients who present with a palpable thyroid mass or diarrhea.[3,4] When thyroidectomy is performed before local nodal metastases occur, distant metastases are rare.[5] Metastatic PHEOs have not been reported in individuals with MEN2.[6] In MEN2, parathyroid abnormalities can range from benign parathyroid adenomas or multigland hyperplasia to clinically evident hyperparathyroidism with hypercalcemia and renal stones.

The understanding of MEN2's natural history continues to evolve. Clinical observations suggest that the natural history of MEN2 (particularly the penetrance of MTC) is variable. The manifestations of MEN2 could be subject to modifying effects from specific RET pathogenic variants, other genes, behavioral factors, or environmental exposures.[7] For example, it is widely reported that most patients with MEN2 will develop MTC. A seminal study from 1989 (published before the RET gene was discovered) found that screening at-risk family members for MTC with pentagastrin stimulation increased penetrance of MTC to 93%.[8] In contrast, penetrance ranged from 41% to 65% when it was solely based on MTC clinical presentation.[9] This difference suggests that individuals with MEN2 have MTC with varying natural history, penetrance, and aggressiveness. As research continues, the understanding of genotype-phenotype correlations and recommendations for the optimal age for thyroidectomy continue to change.[10]

MEN2 can be divided into two subtypes: multiple endocrine neoplasia type 2A (MEN2A) and multiple endocrine neoplasia type 2B (MEN2B). Familial medullary thyroid cancer (FMTC) is generally considered to be part of MEN2A, although it was historically thought to be a separate MEN2 subtype.

Current stratification has moved away from a solely phenotype-based classification to one that is based on genotype (i.e., the pathogenic variant) and phenotype.[11] The MEN2A syndrome is further classified on the basis of the presence of associated conditions. For example, classical MEN2A includes those with MTC, PHEO, and/or hyperparathyroidism. Additional categories include MEN2A with cutaneous lichen amyloidosis, MEN2A with Hirschsprung disease, and FMTC (presence of a RET germline pathogenic variant and MTC but no family history of PHEO or hyperparathyroidism).[1] Classifying a patient or family by MEN2 subtype is useful in determining prognosis and management.

The prevalence of MEN2 has been estimated to be approximately 1 in 35,000 individuals.[12] The vast majority of MEN2 cases are MEN2A.

### References

Wells SA, Asa SL, Dralle H, et al.: Revised American Thyroid Association guidelines for the management of medullary thyroid carcinoma. Thyroid 25 (6): 567-610, 2015.25810047
Kaserer K, Scheuba C, Neuhold N, et al.: Sporadic versus familial medullary thyroid microcarcinoma: a histopathologic study of 50 consecutive patients. Am J Surg Pathol 25 (10): 1245-51, 2001.11688458
Robbins J, Merino MJ, Boice JD, et al.: Thyroid cancer: a lethal endocrine neoplasm. Ann Intern Med 115 (2): 133-47, 1991.2058861 91282192
Moley JF, Debenedetti MK, Dilley WG, et al.: Surgical management of patients with persistent or recurrent medullary thyroid cancer. J Intern Med 243 (6): 521-6, 1998.9681853 98345178
Machens A, Lorenz K, Weber F, et al.: Exceptionality of Distant Metastasis in Node-Negative Hereditary and Sporadic Medullary Thyroid Cancer: Lessons Learned. J Clin Endocrinol Metab 106 (8): e2968-e2979, 2021.33788951
Thosani S, Ayala-Ramirez M, Palmer L, et al.: The characterization of pheochromocytoma and its impact on overall survival in multiple endocrine neoplasia type 2. J Clin Endocrinol Metab 98 (11): E1813-9, 2013.24030942
Machens A, Lorenz K, Weber F, et al.: Lymph node metastasis in hereditary medullary thyroid cancer is independent of the underlying RET germline mutation. Eur J Surg Oncol 47 (4): 920-923, 2021.32962888
Easton DF, Ponder MA, Cummings T, et al.: The clinical and screening age-at-onset distribution for the MEN-2 syndrome. Am J Hum Genet 44 (2): 208-15, 1989.2563193
Ponder BA, Ponder MA, Coffey R, et al.: Risk estimation and screening in families of patients with medullary thyroid carcinoma. Lancet 1 (8582): 397-401, 1988.2893198
Machens A, Lorenz K, Weber F, et al.: Genotype-specific progression of hereditary medullary thyroid cancer. Hum Mutat 39 (6): 860-869, 2018.29656518
Machens A, Lorenz K, Dralle H: Constitutive RET tyrosine kinase activation in hereditary medullary thyroid cancer: clinical opportunities. J Intern Med 266 (1): 114-25, 2009.19522830
DeLellis RA, Lloyd RV, Heitz PU, et al., eds.: Pathology and Genetics of Tumours of Endocrine Organs. IARC Press, 2004. World Health Organization classification of tumours, vol. 8.

## Clinical Features of Multiple Endocrine Neoplasia Type 2 (MEN2)

The following endocrine disorders are observed in MEN2:[1]

- Medullary thyroid cancer (MTC).
- C-cell hyperplasia (CCH), MTC's precursor.
- Pheochromocytoma (PHEO).
- Parathyroid adenomas and/or parathyroid hyperplasia.

### Medullary Thyroid Cancer (MTC) and C-Cell Hyperplasia (CCH)

MTC accounts for 1% to 2% of new cases of thyroid cancer diagnosed annually in the United States.[2] Approximately 75% of MTC cases diagnosed in the United States are sporadic (i.e., they occur in the absence of a family history of either MTC or other endocrine abnormalities seen in MEN2). The peak incidence of the sporadic form occurs in the fifth and sixth decades of life.[3,4]

MTC originates in calcitonin-producing cells (C-cells) of the thyroid gland. MTC is diagnosed when nests of C-cells extend beyond the basement membrane and infiltrate and destroy thyroid follicles. CCH is a controversial diagnosis, but most pathologists agree that it is defined as more than seven C-cells per cluster, complete follicles surrounded by C-cells, and C-cells in a distribution beyond normal anatomical location.[1,5-7] Individuals with RET pathogenic variants and CCH are at substantially increased risk of progressing to MTC. MTC and CCH are suspected in the presence of an elevated plasma calcitonin concentration. Genetic testing and calcitonin screening are associated with improved MTC survival when compared with MTC identified via symptoms.[8-11]

In the absence of a positive family history, MEN2 may be suspected when MTC occurs at an early age or is bilateral or multifocal. While small series of apparently sporadic MTC cases have suggested a higher prevalence of germline RET pathogenic variants,[12,13] larger series indicate a prevalence range of 1% to 7%.[14,15] Based on these data, testing for pathogenic variants in the RET gene is widely recommended for all cases of MTC.[1,16] For more information, see the Genetic Counseling and Genetic Testing section.

Level of evidence (Screening): 3

### Pheochromocytoma (PHEO)

The risk of developing a PHEO is elevated in individuals with multiple endocrine neoplasia type 2A (MEN2A) and multiple endocrine neoplasia type 2B (MEN2B). However, the degree of risk depends on which specific RET pathogenic variant is involved. For more information about PHEO risks for specific RET pathogenic variants, see Table 1.

PHEOs arise from the catecholamine-producing chromaffin cells of the adrenal medulla. They are relatively rare tumors and are suspected among patients with refractory hypertension or when biochemical screening reveals elevated excretion of catecholamines and catecholamine metabolites (i.e., norepinephrine, epinephrine, metanephrine, and vanillylmandelic acid) in 24-hour urine collections or plasma.[17-22] When biochemical screening in an individual who has or is at risk of MEN2 suggests PHEO, localization studies, such as magnetic resonance imaging (MRI) or computed tomography, can be performed.[23] Confirmation of the diagnosis can be made using iodine I 131-metaiodobenzylguanidine scintigraphy or positron emission tomography imaging.[23-26] For more information about diagnostics and biochemical testing for PHEOs, see the Diagnostics section in Pheochromocytoma and Paraganglioma Treatment.

### Primary Hyperparathyroidism (PHPT)

Although PHPT has not been associated with MEN2B, the risk of developing PHPT in MEN2A depends on which specific RET pathogenic variant is involved. For more information about PHPT risks for specific RET pathogenic variants, see Table 1.

Hereditary PHPT is typically multiglandular, presents earlier in life, and can have histologic evidence of both adenoma and glandular hyperplasia. Most patients with MEN2-related parathyroid disease are either asymptomatic or are diagnosed incidentally during preoperative planning or thyroidectomy. Typically, hypercalcemia (when present) is mild. However, hypercalcemia may be associated with nephrolithiasis and increased urinary excretion of calcium.[27]

For information about hereditary syndromes associated with PHPT, see the Genetic Testing and Differential Diagnosis for MEN1 section in Genetics of Endocrine and Neuroendocrine Neoplasias.

### Clinical Subtypes of Multiple Endocrine Neoplasia Type 2 (MEN2)

Diagnosis of the two MEN2 clinical subtypes relies on a combination of clinical findings, family history, and molecular genetic testing of the RET gene.

#### MEN2A

Most patients with MEN2 have the MEN2A subtype.

##### Classical MEN2A

MEN2A is diagnosed clinically by the occurrence of two specific endocrine tumors in addition to MTC: PHEO and/or parathyroid adenoma and/or hyperplasia in a single individual or in close relatives.[1]

The classical MEN2A subtype comprises about 60% to 90% of MEN2 cases. Since genetic testing for RET pathogenic variants has become available, about 95% of individuals with MEN2A screen positive for MTC.[24,28-30]

MTC is generally the first manifestation of MEN2A. In asymptomatic at-risk individuals, stimulation testing may reveal elevated plasma calcitonin levels and the presence of CCH or MTC.[24,29] In families with MEN2A, the biochemical manifestations of MTC generally appear between the ages of 5 years and 25 years (mean, 15 y).[24] If presymptomatic screening is not performed, MTC typically presents as a neck mass or neck pain between the ages of about age 5 years and 20 years. More than 50% of such patients have cervical lymph node metastases.[3] Diarrhea, the most frequent systemic symptom, occurs in patients with a markedly elevated plasma calcitonin level or bulky disease and/or hepatic metastases and implies a poor prognosis.[1,3,31,32] Up to 30% of patients with MTC present with diarrhea and advanced disease.[33]

MEN2-associated PHEOs are more often bilateral, multifocal, and associated with extratumoral medullary hyperplasia.[34-36] They also have an earlier age of onset and are less likely to be malignant than their sporadic counterparts.[34,37] MEN2-associated PHEOs usually present after MTC, typically with intractable hypertension.[38]

Hyperparathyroidism in individuals with MEN2 is typically asymptomatic or associated with only mild elevations in calcium.[33,39] A series of 56 patients with MEN2-related hyperparathyroidism has been reported by the French Calcitonin Tumors Study Group.[39] The median age at diagnosis was 38 years, documenting that this disorder is rarely the first manifestation of MEN2. Parathyroid abnormalities were found concomitantly with surgery for MTC in 43 patients (77%). Two-thirds of the patients were asymptomatic. Among the 53 parathyroid glands removed surgically, there were 24 single adenomas, 4 double adenomas, and 25 hyperplastic glands.

##### MEN2A with cutaneous lichen amyloidosis

A small number of families with MEN2A have pruritic skin lesions known as cutaneous lichen amyloidosis. This lichenoid skin lesion is located over the upper portion of the back and may appear before the onset of MTC.[40,41] For more information, see Table 1.

##### MEN2A with Hirschsprung disease (HSCR)

HSCR, a disorder of the enteric plexus of the colon that typically results in enlargement of the bowel and constipation or obstipation in neonates, occurs in a small number of individuals with MEN2A-associated RET pathogenic variants.[42] Pathogenic variants at specific cysteine residues in exon 10 (i.e., codons 609, 618, and 620) are most commonly associated with HSCR, although individuals with pathogenic variants in other exons can still be affected.[43] For more information, see Table 1. HSCR can occur outside of a diagnosis of MEN2A, and infants with HSCR may benefit from their own genetic evaluation, regardless of the likelihood of MEN2A. Up to 40% of familial cases of HSCR and 3% to 7% of sporadic cases are associated with germline pathogenic variants in the RET proto-oncogene.[44 ,45] Certain loss-of-function RET variants have been associated with isolated HSCR,[46] indicating that not all individuals with HSCR and a germline RET variant necessarily have MEN2A.

Figure 1 depicts some of the classic manifestations of MEN2A in a family.

Figure 1. MEN2A pedigree. This pedigree shows some of the classic features of a family with a RET pathogenic variant across four generations, including affected family members with medullary thyroid cancer, pheochromocytoma, and hyperparathyroidism. Age at onset can vary widely, even within families. MEN2A families may exhibit some or all of these features. As an autosomal dominant syndrome, transmission can occur through maternal or paternal lineages.

Pedigree showing some of the classic features of a family with a deleterious RET mutation across four generations, including transmission occurring through paternal lineage. The unaffected female proband is shown as having an affected brother (medullary thyroid cancer diagnosed at age 22 y and hyperparathyroidism diagnosed at age 24 y), father (medullary thyroid cancer diagnosed at age 54 y and pheochromocytoma diagnosed at age 67 y), and paternal aunt (medullary thyroid cancer diagnosed at age 38 y).

##### Familial medullary thyroid cancer (FMTC)

Up to 50% of MEN2A cases are of the FMTC subtype, and are defined as families or individuals with germline RET pathogenic variants and MTC alone in the absence of PHEO or parathyroid adenoma/hyperplasia.[1] This definition replaces previous classification of FMTC as a stand-alone diagnosis.[1] Previously, misclassification of families as having FMTC (because of too-small family size or later onset of other manifestations of MEN2A) could result in overlooking the risk of PHEO, a disease with significant morbidity and mortality. For this reason, FMTC is now considered a subtype of MEN2A in which there is a lack of or delay in the onset of the other (nonthyroidal) manifestations of the MEN2A syndrome.[47] Current management guidelines [1] recommend that patients thought to have pure FMTC also be screened for PHEO and hyperparathyroidism.

#### MEN2B

The MEN2B subtype comprises about 5% of MEN2 cases. MEN2B is characterized by the development of aggressive MTC at a young age (in all patients), the presence of mucosal neuromas, gastrointestinal ganglioneuromatosis, medullated corneal nerve fibers, and distinct physical features.[48-51] PHEOs occur in about 50% of MEN2B cases. About half of these cases have multiple PHEOs, which are often bilateral. Clinically apparent parathyroid disease is very uncommon in individuals with MEN2B.[28,48]

In cases of de novo pathogenic variants, the diagnosis of MEN2B is often delayed, after the development of MTC. The MTC is often fatal, particularly in the presence of metastatic disease, which is common at the time of diagnosis. It is important for pediatricians to recognize the endocrine and nonendocrine clinical manifestations of the syndrome as an earlier diagnosis may result in lifesaving treatment of MTC, before metastatic spread.[52]

Patients with MEN2B who do not undergo thyroidectomy at approximately age 1 year are likely to develop metastatic MTC at an early age. Before intervention with early risk-reducing thyroidectomy, the average age at death in patients with MEN2B was 21 years.

Patients with MEN2B may be identified in infancy or early childhood by a distinctive facial appearance and the presence of mucosal neuromas on the anterior dorsal surface of the tongue, palate, or pharynx.[28,48] The lips become prominent over time, and submucosal nodules may be present on the vermilion border of the lips. Neuromas of the eyelids may cause thickening and eversion of the upper eyelid margins. Prominent thickened corneal nerves may be seen by slit lamp examination.

Patients with MEN2B may have diffuse ganglioneuromatosis of the gastrointestinal tract with associated symptoms that include abdominal distension, megacolon, constipation, and diarrhea.[53,54] A review of the literature reported constipation as a common symptom in 72.7% of patients with MEN2B. Additionally, gastrointestinal symptoms occurred during the first year of life in 52.3% of patients with MEN2B. Intestinal biopsy led to the diagnosis of ganglioneuromatosis in 27.3% of patients.[55]

About 75% of patients with MEN2B have tall, thin body types, with arms and legs that are proportionately long when compared with their torso/overall height. Patients also present with kyphoscoliosis/lordosis, joint laxity, and decreased subcutaneous fat. Proximal muscle wasting and weakness can also be seen.[50,51]

A retrospective review of the clinical presentation of 35 cases of MEN2B with de novo pathogenic variants treated at a single institution found that 22 cases were diagnosed because of endocrine manifestations of the syndrome.[52] The diagnosis of PHEO, a neck mass, and/or skeletal abnormalities led to the identification of MTC. The remaining 13 patients presented with a nonendocrine manifestation, including oral neuromas, corneal nerve abnormalities, persistent diarrhea, failure to thrive, or skeletal abnormalities with frequent falls. Of the entire cohort, 21 patients had one or more physician referrals for the evaluation of an MEN2B-related feature, an average of 5 years before the diagnosis of MEN2B.

### References

Wells SA, Asa SL, Dralle H, et al.: Revised American Thyroid Association guidelines for the management of medullary thyroid carcinoma. Thyroid 25 (6): 567-610, 2015.25810047
Howlader N, Noone AM, Krapcho M, et al.: SEER Cancer Statistics Review (CSR) 1975-2017. Bethesda, Md: National Cancer Institute, 2020. Available online (https://seer.cancer.gov/csr/1975_2017/). Last accessed February 7, 2025.
Robbins J, Merino MJ, Boice JD, et al.: Thyroid cancer: a lethal endocrine neoplasm. Ann Intern Med 115 (2): 133-47, 1991.2058861 91282192
Gharib H, McConahey WM, Tiegs RD, et al.: Medullary thyroid carcinoma: clinicopathologic features and long-term follow-up of 65 patients treated during 1946 through 1970. Mayo Clin Proc 67 (10): 934-40, 1992.1434853 93061312
Guyétant S, Rousselet MC, Durigon M, et al.: Sex-related C cell hyperplasia in the normal human thyroid: a quantitative autopsy study. J Clin Endocrinol Metab 82 (1): 42-7, 1997.8989230
LiVolsi VA: C cell hyperplasia/neoplasia. J Clin Endocrinol Metab 82 (1): 39-41, 1997.8989229
Mete O, Asa SL: Precursor lesions of endocrine system neoplasms. Pathology 45 (3): 316-30, 2013.23478233
Roman S, Lin R, Sosa JA: Prognosis of medullary thyroid carcinoma: demographic, clinical, and pathologic predictors of survival in 1252 cases. Cancer 107 (9): 2134-42, 2006.17019736
Modigliani E, Vasen HM, Raue K, et al.: Pheochromocytoma in multiple endocrine neoplasia type 2: European study. The Euromen Study Group. J Intern Med 238 (4): 363-7, 1995.7595173 96069653
Bergholm U, Bergström R, Ekbom A: Long-term follow-up of patients with medullary carcinoma of the thyroid. Cancer 79 (1): 132-8, 1997.8988737 97142715
Kebebew E, Ituarte PH, Siperstein AE, et al.: Medullary thyroid carcinoma: clinical characteristics, treatment, prognostic factors, and a comparison of staging systems. Cancer 88 (5): 1139-48, 2000.10699905 20164362
Decker RA, Peacock ML, Borst MJ, et al.: Progress in genetic screening of multiple endocrine neoplasia type 2A: is calcitonin testing obsolete? Surgery 118 (2): 257-63; discussion 263-4, 1995.7638742 95365940
Kitamura Y, Goodfellow PJ, Shimizu K, et al.: Novel germline RET proto-oncogene mutations associated with medullary thyroid carcinoma (MTC): mutation analysis in Japanese patients with MTC. Oncogene 14 (25): 3103-6, 1997.9223675 97366845
Eng C, Mulligan LM, Smith DP, et al.: Low frequency of germline mutations in the RET proto-oncogene in patients with apparently sporadic medullary thyroid carcinoma. Clin Endocrinol (Oxf) 43 (1): 123-7, 1995.7641404 95368857
Wohllk N, Cote GJ, Bugalho MM, et al.: Relevance of RET proto-oncogene mutations in sporadic medullary thyroid carcinoma. J Clin Endocrinol Metab 81 (10): 3740-5, 1996.8855832
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Thyroid Carcinoma. Version 2.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free subscription (https://www.nccn.org/professionals/physician_gls/pdf/thyroid.pdf) Last accessed December 9, 2024.
Lenders JW, Pacak K, Walther MM, et al.: Biochemical diagnosis of pheochromocytoma: which test is best? JAMA 287 (11): 1427-34, 2002.11903030
Gerlo EA, Sevens C: Urinary and plasma catecholamines and urinary catecholamine metabolites in pheochromocytoma: diagnostic value in 19 cases. Clin Chem 40 (2): 250-6, 1994.7906208
Guller U, Turek J, Eubanks S, et al.: Detecting pheochromocytoma: defining the most sensitive test. Ann Surg 243 (1): 102-7, 2006.16371743
Raber W, Raffesberg W, Bischof M, et al.: Diagnostic efficacy of unconjugated plasma metanephrines for the detection of pheochromocytoma. Arch Intern Med 160 (19): 2957-63, 2000.11041903
Sawka AM, Jaeschke R, Singh RJ, et al.: A comparison of biochemical tests for pheochromocytoma: measurement of fractionated plasma metanephrines compared with the combination of 24-hour urinary metanephrines and catecholamines. J Clin Endocrinol Metab 88 (2): 553-8, 2003.12574179
Unger N, Pitt C, Schmidt IL, et al.: Diagnostic value of various biochemical parameters for the diagnosis of pheochromocytoma in patients with adrenal mass. Eur J Endocrinol 154 (3): 409-17, 2006.16498054
Pacak K, Eisenhofer G, Ahlman H, et al.: Pheochromocytoma: recommendations for clinical practice from the First International Symposium. October 2005. Nat Clin Pract Endocrinol Metab 3 (2): 92-102, 2007.17237836
Lips CJ, Landsvater RM, Höppener JW, et al.: Clinical screening as compared with DNA analysis in families with multiple endocrine neoplasia type 2A. N Engl J Med 331 (13): 828-35, 1994.7915822 94359543
van der Harst E, de Herder WW, Bruining HA, et al.: [(123)I]metaiodobenzylguanidine and [(111)In]octreotide uptake in begnign and malignant pheochromocytomas. J Clin Endocrinol Metab 86 (2): 685-93, 2001.11158032
Pacak K, Linehan WM, Eisenhofer G, et al.: Recent advances in genetics, diagnosis, localization, and treatment of pheochromocytoma. Ann Intern Med 134 (4): 315-29, 2001.11182843 21091630
Brandi ML, Gagel RF, Angeli A, et al.: Guidelines for diagnosis and therapy of MEN type 1 and type 2. J Clin Endocrinol Metab 86 (12): 5658-71, 2001.11739416 21601881
Eng C, Clayton D, Schuffenecker I, et al.: The relationship between specific RET proto-oncogene mutations and disease phenotype in multiple endocrine neoplasia type 2. International RET mutation consortium analysis. JAMA 276 (19): 1575-9, 1996.8918855 97078730
Sanso GE, Domene HM, Garcia R, et al.: Very early detection of RET proto-oncogene mutation is crucial for preventive thyroidectomy in multiple endocrine neoplasia type 2 children: presence of C-cell malignant disease in asymptomatic carriers. Cancer 94 (2): 323-30, 2002.11900218 21896886
Yip L, Cote GJ, Shapiro SE, et al.: Multiple endocrine neoplasia type 2: evaluation of the genotype-phenotype relationship. Arch Surg 138 (4): 409-16; discussion 416, 2003.12686527 22572550
Rambaud JC, Jian R, Flourié B, et al.: Pathophysiological study of diarrhoea in a patient with medullary thyroid carcinoma. Evidence against a secretory mechanism and for the role of shortened colonic transit time. Gut 29 (4): 537-43, 1988.3371722
Cox TM, Fagan EA, Hillyard CJ, et al.: Rôle of calcitonin in diarrhoea associated with medullary carcinoma of the thyroid. Gut 20 (7): 629-33, 1979.226460
Raue F, Frank-Raue K, Grauer A: Multiple endocrine neoplasia type 2. Clinical features and screening. Endocrinol Metab Clin North Am 23 (1): 137-56, 1994.7913021 94298789
Perren A, Komminoth P: Familial pheochromocytomas and paragangliomas: stories from the sign-out room. Endocr Pathol 17 (4): 337-44, 2006.17525482
Webb TA, Sheps SG, Carney JA: Differences between sporadic pheochromocytoma and pheochromocytoma in multiple endocrime neoplasia, type 2. Am J Surg Pathol 4 (2): 121-6, 1980.6103678
Lips KJ, Van der Sluys Veer J, Struyvenberg A, et al.: Bilateral occurrence of pheochromocytoma in patients with the multiple endocrine neoplasia syndrome type 2A (Sipple's syndrome). Am J Med 70 (5): 1051-60, 1981.7234871
Neumann HP, Berger DP, Sigmund G, et al.: Pheochromocytomas, multiple endocrine neoplasia type 2, and von Hippel-Lindau disease. N Engl J Med 329 (21): 1531-8, 1993.8105382 94019642
Conte-Devolx B, Schuffenecker I, Niccoli P, et al.: Multiple endocrine neoplasia type 2: management of patients and subjects at risk. French Study Group on Calcitonin-Secreting Tumors (GETC). Horm Res 47 (4-6): 221-6, 1997.9167955 97311056
Kraimps JL, Denizot A, Carnaille B, et al.: Primary hyperparathyroidism in multiple endocrine neoplasia type IIa: retrospective French multicentric study. Groupe d'Etude des Tumeurs á Calcitonine (GETC, French Calcitonin Tumors Study Group), French Association of Endocrine Surgeons. World J Surg 20 (7): 808-12; discussion 812-3, 1996.8678955 96427227
Bugalho MJ, Limbert E, Sobrinho LG, et al.: A kindred with multiple endocrine neoplasia type 2A associated with pruritic skin lesions. Cancer 70 (11): 2664-7, 1992.1358428 93046041
Robinson MF, Furst EJ, Nunziata V, et al.: Characterization of the clinical features of five families with hereditary primary cutaneous lichen amyloidosis and multiple endocrine neoplasia type 2. Henry Ford Hosp Med J 40 (3-4): 249-52, 1992.1362415 93131554
Romeo G, Ceccherini I, Celli J, et al.: Association of multiple endocrine neoplasia type 2 and Hirschsprung disease. J Intern Med 243 (6): 515-20, 1998.9681852 98345177
Mulligan LM, Eng C, Attié T, et al.: Diverse phenotypes associated with exon 10 mutations of the RET proto-oncogene. Hum Mol Genet 3 (12): 2163-7, 1994.7881414
Decker RA, Peacock ML, Watson P: Hirschsprung disease in MEN 2A: increased spectrum of RET exon 10 genotypes and strong genotype-phenotype correlation. Hum Mol Genet 7 (1): 129-34, 1998.9384613 98046016
Carrasquillo MM, McCallion AS, Puffenberger EG, et al.: Genome-wide association study and mouse model identify interaction between RET and EDNRB pathways in Hirschsprung disease. Nat Genet 32 (2): 237-44, 2002.12355085 22242600
Fewtrell MS, Tam PK, Thomson AH, et al.: Hirschsprung's disease associated with a deletion of chromosome 10 (q11.2q21.2): a further link with the neurocristopathies? J Med Genet 31 (4): 325-7, 1994.7915329
Pacini F, Castagna MG, Cipri C, et al.: Medullary thyroid carcinoma. Clin Oncol (R Coll Radiol) 22 (6): 475-85, 2010.20627492
Brauckhoff M, Machens A, Hess S, et al.: Premonitory symptoms preceding metastatic medullary thyroid cancer in MEN 2B: An exploratory analysis. Surgery 144 (6): 1044-50; discussion 1050-3, 2008.19041016
Castinetti F, Moley J, Mulligan L, et al.: A comprehensive review on MEN2B. Endocr Relat Cancer 25 (2): T29-T39, 2018.28698189
Gorlin RJ, Sedano HO, Vickers RA, et al.: Multiple mucosal neuromas, pheochromocytoma and medullary carcinoma of the thyroid--a syndrome. Cancer 22 (2): 293-9 passim, 1968.5660196
Gorlin RJ, Vickers RA: Multiple mucosal neuromas, pheochromocytoma, medullary carcinoma of the thyroid and marfanoid body build with muscle wasting: reexamination of a syndrome of neural crest malmigration. Birth Defects Orig Artic Ser 7 (6): 69-72, 1971.4950920
Makri A, Akshintala S, Derse-Anthony C, et al.: Multiple Endocrine Neoplasia Type 2B Presents Early in Childhood but Often Is Undiagnosed for Years. J Pediatr 203: 447-449, 2018.30314660
Wells SA, Pacini F, Robinson BG, et al.: Multiple endocrine neoplasia type 2 and familial medullary thyroid carcinoma: an update. J Clin Endocrinol Metab 98 (8): 3149-64, 2013.23744408
van den Broek MFM, Rijks EBG, Nikkels PGJ, et al.: Timely diagnosis of multiple endocrine neoplasia 2B by identification of intestinal ganglioneuromatosis: a case series. Endocrine 72 (3): 905-914, 2021.33474713
Gfroerer S, Theilen TM, Fiegel H, et al.: Identification of intestinal ganglioneuromatosis leads to early diagnosis of MEN2B: role of rectal biopsy. J Pediatr Surg 52 (7): 1161-1165, 2017.27899172

## Diagnosing Multiple Endocrine Neoplasia Type 2 (MEN2)

MEN2 is a well-defined hereditary cancer syndrome. Genetic testing is an important management tool that defines who has an MEN2 diagnosis. It can also provide family members with predictive genetic testing options. There are also rare cases of suspected MEN2 in which a genetic variant has not been identified.

### Genetic Counseling and Genetic Testing

MEN2 syndrome is the result of an inherited pathogenic variant in the RET gene, located on chromosome region 10q11.2.[1-3] The RET gene is a proto-oncogene composed of 21 exons over 55 kilobase of genomic material.[4,5] Germline DNA testing for RET pathogenic variants is recommended for all individuals with medullary thyroid cancer (MTC) by the American Thyroid Association and the National Comprehensive Cancer Network.[6-8] Testing is recommended regardless of whether there is a personal or family history suggestive of MEN2. Additionally, MEN2 meets the criteria related to indications for genetic testing for cancer susceptibility outlined by the American Society of Clinical Oncology.[9]

It is critical for pediatricians and other providers who care for infants/children (e.g., gastroenterologists, pathologists, oral health care professionals) to maintain a high index of suspicion when evaluating patients with any clinical manifestations associated with multiple endocrine neoplasia type 2B (MEN2B). In a child or infant, the presence of oral and/or ocular neuromas, gastrointestinal manifestations like severe constipation and/or the need for a rectal biopsy, and/or a tall, lanky body type may warrant further investigation. The identification of these features can prompt early diagnosis of MEN2B and provide the opportunity to prevent or cure MTC.[10,11] Genetic counseling has been recommended for individuals with MTC and any of the following features:[10,12,13]

- Benign oral and submucosal neuromas.
- Elongated face and large lips.
- Ganglioneuromatosis.
- Inability to cry tears (biological mechanism unknown).

While most MTC cases are sporadic, approximately 20% to 25% are hereditary.[14] These hereditary cases are caused by pathogenic variants in the RET proto-oncogene. Between 1% and 10% of individuals with apparently sporadic MTC carry a germline RET pathogenic variant, underscoring the importance of genetic testing for all individuals diagnosed with MTC.[15-17]

There is considerable diversity in the techniques used and the approach to RET pathogenic variant testing among the various laboratories that perform this procedure. Methods used to detect variants in RET include polymerase chain reaction (PCR) followed by restriction enzyme digestion of PCR products, heteroduplex analysis, single-stranded conformation polymorphism analysis, denaturing high-performance liquid chromatography, and DNA sequencing.[18,19] At a minimum, most testing laboratories offer testing using a targeted exon approach; that is, the laboratories look for variants in the exons that are most commonly found to carry variants (exons 10, 11, 13, 14, 15 and 16). Other laboratories offer testing of all RET exons. Differences in variant detection methods are important to consider when selecting a genetic testing laboratory and interpreting the test results. For example, if MEN2 targeted-exon testing is negative in a family that is suspected to have MEN2, sequencing of the remaining exons can be considered. For more information on clinical validity, see Cancer Genetics Risk Assessment and Counseling.

#### Familial risk assessment

At-risk individuals are defined as first-degree relatives (i.e., parents, siblings, and children) of a person known to have MEN2. Genetic testing can identify people with asymptomatic MEN2. These individuals can consider biochemical screening and early thyroidectomy as preventive measures. All MEN2 subtypes are inherited in an autosomal dominant manner. The risk of inheriting the RET pathogenic variant is 50% in children of individuals with MEN2. Because early detection of at-risk individuals affects medical management, testing children without MEN2 symptoms can be beneficial.[20,21]

Some individuals with MEN2 carry a de novo pathogenic variant; that is, they carry a new pathogenic variant that was not present in previous generations of their family and thus do not have an affected parent. The proportion of individuals with MEN2 who have an affected parent varies by subtype:

- Multiple endocrine neoplasia type 2A (MEN2A): About 95% of affected individuals have an affected parent. Parents of an individual with MEN2A can be evaluated for manifestations of the disorder. In MEN2A cases that are not familial (5%), either de novo pathogenic variants or incomplete penetrance is possible.[22]
- Familial medullary thyroid cancer (FMTC): Multiple family members are affected. Therefore, all affected individuals inherited the RET pathogenic variant from a parent.
- Multiple endocrine neoplasia type 2B (MEN2B): About 50% of affected individuals have de novo RET pathogenic variants, and 50% inherited the pathogenic variant from a parent.[23,24] The majority of de novo pathogenic variants occur on the paternally-inherited allele, but de novo pathogenic variants on the maternally-inherited allele have also been reported.[25]

The risk of siblings having MEN2 depends on the genetic status of the parent, which can be clarified by pedigree analysis and/or DNA-based testing. In situations of apparent de novo pathogenic variants, germline mosaicism in an apparently unaffected parent must be considered, even though such an occurrence has not yet been reported.

In rare circumstances, genetic testing is negative in a patient with a personal or family history suggestive of MEN2. Negative pathogenic variant analysis in at-risk relatives is informative only after a disease-causing pathogenic variant has been identified in an affected relative. Familial screening recommendations are personalized, and updated genetic testing is recommended in families suspected of having MEN2 (in which a RET pathogenic variant has not been identified).

For more information about clinical management of at-risk individuals, see the Genotype-Phenotype Correlations and Risk Stratification in MEN2 section.

### References

Gardner E, Papi L, Easton DF, et al.: Genetic linkage studies map the multiple endocrine neoplasia type 2 loci to a small interval on chromosome 10q11.2. Hum Mol Genet 2 (3): 241-6, 1993.8098977 93271980
Mole SE, Mulligan LM, Healey CS, et al.: Localisation of the gene for multiple endocrine neoplasia type 2A to a 480 kb region in chromosome band 10q11.2. Hum Mol Genet 2 (3): 247-52, 1993.8098978 93271981
Takahashi M, Ritz J, Cooper GM: Activation of a novel human transforming gene, ret, by DNA rearrangement. Cell 42 (2): 581-8, 1985.2992805 85282615
Kwok JB, Gardner E, Warner JP, et al.: Structural analysis of the human ret proto-oncogene using exon trapping. Oncogene 8 (9): 2575-82, 1993.8361767 93368962
Myers SM, Eng C, Ponder BA, et al.: Characterization of RET proto-oncogene 3' splicing variants and polyadenylation sites: a novel C-terminus for RET. Oncogene 11 (10): 2039-45, 1995.7478523 96074832
Wells SA, Asa SL, Dralle H, et al.: Revised American Thyroid Association guidelines for the management of medullary thyroid carcinoma. Thyroid 25 (6): 567-610, 2015.25810047
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Thyroid Carcinoma. Version 2.2023. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2023. Available online with free subscription (https://www.nccn.org/professionals/physician_gls/pdf/thyroid.pdf) Last accessed December 9, 2024.
Brandi ML, Gagel RF, Angeli A, et al.: Guidelines for diagnosis and therapy of MEN type 1 and type 2. J Clin Endocrinol Metab 86 (12): 5658-71, 2001.11739416 21601881
Robson ME, Bradbury AR, Arun B, et al.: American Society of Clinical Oncology Policy Statement Update: Genetic and Genomic Testing for Cancer Susceptibility. J Clin Oncol 33 (31): 3660-7, 2015.26324357
Hampel H, Bennett RL, Buchanan A, et al.: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 17 (1): 70-87, 2015.25394175
van den Broek MFM, Rijks EBG, Nikkels PGJ, et al.: Timely diagnosis of multiple endocrine neoplasia 2B by identification of intestinal ganglioneuromatosis: a case series. Endocrine 72 (3): 905-914, 2021.33474713
Brauckhoff M, Machens A, Hess S, et al.: Premonitory symptoms preceding metastatic medullary thyroid cancer in MEN 2B: An exploratory analysis. Surgery 144 (6): 1044-50; discussion 1050-3, 2008.19041016
Bashford MT, Kohlman W, Everett J, et al.: Addendum: A practice guideline from the American College of Medical Genetics and Genomics and the National Society of Genetic Counselors: referral indications for cancer predisposition assessment. Genet Med 21 (12): 2844, 2019.31332281
Romei C, Ciampi R, Elisei R: A comprehensive overview of the role of the RET proto-oncogene in thyroid carcinoma. Nat Rev Endocrinol 12 (4): 192-202, 2016.26868437
Romei C, Cosci B, Renzini G, et al.: RET genetic screening of sporadic medullary thyroid cancer (MTC) allows the preclinical diagnosis of unsuspected gene carriers and the identification of a relevant percentage of hidden familial MTC (FMTC). Clin Endocrinol (Oxf) 74 (2): 241-7, 2011.21054478
Elisei R, Cosci B, Romei C, et al.: Prognostic significance of somatic RET oncogene mutations in sporadic medullary thyroid cancer: a 10-year follow-up study. J Clin Endocrinol Metab 93 (3): 682-7, 2008.18073307
Sarika HL, Papathoma A, Garofalaki M, et al.: Genetic screening of patients with medullary thyroid cancer in a referral center in Greece during the past two decades. Eur J Endocrinol 172 (4): 501-9, 2015.25624014
Mathiesen JS, Kroustrup JP, Vestergaard P, et al.: Distribution of RET Mutations in Multiple Endocrine Neoplasia 2 in Denmark 1994-2014: A Nationwide Study. Thyroid 27 (2): 215-223, 2017.27809725
Wells SA: Advances in the management of MEN2: from improved surgical and medical treatment to novel kinase inhibitors. Endocr Relat Cancer 25 (2): T1-T13, 2018.29142004
Robson ME, Storm CD, Weitzel J, et al.: American Society of Clinical Oncology policy statement update: genetic and genomic testing for cancer susceptibility. J Clin Oncol 28 (5): 893-901, 2010.20065170
Points to consider: ethical, legal, and psychosocial implications of genetic testing in children and adolescents. American Society of Human Genetics Board of Directors, American College of Medical Genetics Board of Directors. Am J Hum Genet 57 (5): 1233-41, 1995.7485175 96026119
Schuffenecker I, Ginet N, Goldgar D, et al.: Prevalence and parental origin of de novo RET mutations in multiple endocrine neoplasia type 2A and familial medullary thyroid carcinoma. Le Groupe d'Etude des Tumeurs a Calcitonine. Am J Hum Genet 60 (1): 233-7, 1997.8981969 97136592
Norum RA, Lafreniere RG, O'Neal LW, et al.: Linkage of the multiple endocrine neoplasia type 2B gene (MEN2B) to chromosome 10 markers linked to MEN2A. Genomics 8 (2): 313-7, 1990.1979053 91065649
Carlson KM, Bracamontes J, Jackson CE, et al.: Parent-of-origin effects in multiple endocrine neoplasia type 2B. Am J Hum Genet 55 (6): 1076-82, 1994.7977365 95067969
Kitamura Y, Scavarda N, Wells SA, et al.: Two maternally derived missense mutations in the tyrosine kinase domain of the RET protooncogene in a patient with de novo MEN 2B. Hum Mol Genet 4 (10): 1987-8, 1995.8595427 96121602

## Genotype-Phenotype Correlations and Risk Stratification in Multiple Endocrine Neoplasia Type 2 (MEN2)

Genotype-phenotype correlations in MEN2 are well established and have long been used to guide clinicians in making medical management recommendations. Several groups have developed pathogenic variant–stratification tables based on clinical phenotype, age of onset, and aggressiveness of medullary thyroid cancer (MTC).[1-3] This classification strategy was first put forth after the Seventh International Workshop on MEN in 2001, which provided guidelines for the age of genetic testing and risk-reducing thyroidectomy.[1] This stratification has been revised by the American Thyroid Association (ATA).[3-5] The specific pathogenic variants and their ATA classification are summarized in Table 1 below.

ATA-Highest Risk (HST) RET pathogenic variants are the most aggressive and carry the highest risk of developing MTC.[3] This category includes those with multiple endocrine neoplasia type 2B (MEN2B) and RET codon M918T pathogenic variants and is associated with the youngest age at disease onset and the highest risk of mortality. ATA-High Risk (H) RET pathogenic variants, at codons 634 and 883, are associated with a slightly lower risk, yet the MTC in patients with these pathogenic variants is still quite aggressive and may present at an early age.[6] The third category of RET variants are designated as ATA-Moderate Risk (MOD) variants.[5] These variants are associated with lower risk of aggressive MTC relative to the risk seen in carriers of ATA-HST and ATA-H RET pathogenic variants. Results from a study of 387 RET pathogenic variant carriers with MTC have suggested that ATA-MOD variants may be associated with MTC as aggressive as seen in individuals with ATA-H variants but present at a later age.[7] The risk of MTC is still substantially elevated over the general population risk, and consideration of risk-reducing thyroidectomy is warranted.[3] Patients with early stage I and stage II disease can achieve 100% survival rates regardless of the ATA risk category.[7] Common pathogenic variants in the ATA-MOD category are shown in Table 1.

Pathogenic variants at codons 883 and 918 have been seen only in MEN2B and are associated with the earliest age of onset and the most aggressive form of MTC.[6,8-12] Approximately 95% of individuals with MEN2B have the M918T pathogenic variant.[8-10,13] As discussed above, 50% of individuals with MEN2B will develop pheochromocytoma (PHEO), but primary hyperparathyroidism (PHPT) is rare. A retrospective review of all published cases of A883F variant carriers (N = 13) found that the MTC disease course was more indolent than what was observed in M918T carriers. A883F carriers had later disease onset (50% penetrance for MTC at age 19 y), 5- and 10-year survival rates of 88%, and 63% of patients achieved biochemical cure for MTC.[6] In addition to variants at codons 883 and 918, some individuals with an MEN2B-like phenotype have been found to carry two germline variants on the same allele.[14-18] It is likely that as testing for RET becomes more common in clinical practice, additional double variant phenotypes will be described.

Pathogenic variants at codon 634 (ATA-H) are by far the most frequent finding in families with multiple endocrine neoplasia type 2A (MEN2A). One study of 477 RET carriers showed that 52.1% had the C634R pathogenic variant, 26.0% carried the C634Y pathogenic variant, and 9.1% had the C634G pathogenic variant.[19] In general, pathogenic variants in codon 634 are associated with PHEOs and PHPT.[19,20] MEN2A with cutaneous lichen amyloidosis had been seen almost exclusively in patients with pathogenic variants in codon 634, although MTC and cutaneous lichen amyloidosis have been reported in a patient with a pathogenic variant in codon 804.[19,21-23] Codon 634 pathogenic variants have also been described in familial medullary thyroid cancer (FMTC) but are almost exclusively C634Y.[19]

Moderate-risk variants located in exon 10 of the RET gene include variants in codons 609, 611, 618, 620, and 630. These variants involve cysteine residues in the extracellular domain of the RET protein and have been seen in families with MEN2A and those with MTC only (FMTC).[2,19,24-29] The risk of MTC in individuals with these pathogenic variants can be as high as 95%. The risk of PHEO and hyperparathyroidism is lower than that seen in individuals with high-risk pathogenic variants.

Individuals with pathogenic variants in codons 321, 515, 533, 600, 603, 606, 531/9 base pair duplication, and 532 duplication have a lower, albeit still elevated, lifetime risk of MTC. MTC associated with these pathogenic variants tends to follow a more indolent course and have a later age at onset, although there are several reports of individuals with these pathogenic variants who developed MTC before age 20 years.[19,30-34] Although PHEO and PHPT are not commonly associated with these pathogenic variants, they have been described.[34]

Table 1. Genotype-Phenotype Correlations in Multiple Endocrine Neoplasia Type 2^a^

RET Pathogenic variant | Exon | Risk of Aggressive MTC | Approximate Incidence of PHEO | Approximate Incidence of PHPT | Presence of CLA | Presence of HSCR
G533C | 8 | Moderate | 10% | - | N | N
C609F/G/R/S/Y | 10 | Moderate | 10%–30% | 10% | N | Y
C611F/G/S/Y/W | 10 | Moderate | 10%–30% | 10% | N | Y
C618F/R/S | 10 | Moderate | 10%–30% | 10% | N | Y
C620F/R/S | 10 | Moderate | 10%–30% | 10% | N | Y
C630R/Y | 11 | Moderate | 10%–30% | 10% | N | N
D631Y | 11 | Moderate | 50% | - | N | N
C634F/G/R/S/W/Y | 11 | High | 50% | 20%–30% | Y | N
K666E | 11 | Moderate | 10% | - | N | N
E768D | 13 | Moderate | - | - | N | N
L790F | 13 | Moderate | 10% | - | N | N
V804L | 14 | Moderate | 10% | 10% | N | N
V804M | 14 | Moderate | 10% | 10% | Y | N
A883F | 15 | High | 50% | - | N | N
S891A | 15 | Moderate | 10% | 10% | N | N
R912P | 16 | Moderate | - | - | N | N
M918T | 16 | Highest | 50% | - | N | N

CLA = cutaneous lichen amyloidosis; HSCR = Hirschsprung disease; MTC = medullary thyroid cancer; PHEO = pheochromocytoma; PHPT = primary hyperparathyroidism.

^a^Adapted from Wells et al.[3]

In addition to the pathogenic variants categorized in Table 1, a number of rare or novel RET variants have been described. Some of these represent pathogenic variants that lead to MEN2A phenotypes. Others may represent low-penetrance alleles or modifying alleles that confer only a modest risk of developing MTC.[35] A multicenter study identified eight families with a RET K666N variant. Of the 16 screened family members identified as having a pathogenic variant, only one had MTC.[35] Still others may have benign polymorphisms of no clinical significance. For example, some studies show compelling evidence that RET variants Y791F (p.Tyr791Phe) and S649L (p.Ser649Leu) are likely benign polymorphisms; this was based on the equal frequencies seen between cases and healthy controls and co-occurrence with other disease-causing variants that cosegregate with disease in the family.[36,37] A long-term follow-up study of Danish Y791F carriers (n = 20) showed no sign of MEN2A (MTC, PHPT, PHEO, cutaneous lichen amyloidosis, or Hirschsprung disease) among the cohort, with a median age of 49.5 years (range, 7–87 y).[38] Therefore, carriers of these variants are not followed with MEN2 management guidelines. Asymptomatic family members are generally not tested for these variants.

Research is ongoing into the role of neutral RET sequence variants in modifying the clinical presentation of patients with MEN2A. The presence of certain RET polymorphisms or haplotypes is being analyzed for its impact on the likelihood for development of PHEO, hyperparathyroidism, HSCR, and age at onset of metastatic involvement with MTC.[39-42] A variety of approaches, including segregation analyses, in silico analyses, association studies, and functional assays, can be employed to determine the functional and clinical significance of a given genetic variant.[43]

### References

Brandi ML, Gagel RF, Angeli A, et al.: Guidelines for diagnosis and therapy of MEN type 1 and type 2. J Clin Endocrinol Metab 86 (12): 5658-71, 2001.11739416 21601881
Kouvaraki MA, Shapiro SE, Perrier ND, et al.: RET proto-oncogene: a review and update of genotype-phenotype correlations in hereditary medullary thyroid cancer and associated endocrine tumors. Thyroid 15 (6): 531-44, 2005.16029119
Wells SA, Asa SL, Dralle H, et al.: Revised American Thyroid Association guidelines for the management of medullary thyroid carcinoma. Thyroid 25 (6): 567-610, 2015.25810047
Kloos RT, Eng C, Evans DB, et al.: Medullary thyroid cancer: management guidelines of the American Thyroid Association. Thyroid 19 (6): 565-612, 2009.19469690
Voss RK, Feng L, Lee JE, et al.: Medullary Thyroid Carcinoma in MEN2A: ATA Moderate- or High-Risk RET Mutations Do Not Predict Disease Aggressiveness. J Clin Endocrinol Metab 102 (8): 2807-2813, 2017.28609830
Mathiesen JS, Habra MA, Bassett JHD, et al.: Risk Profile of the RET A883F Germline Mutation: An International Collaborative Study. J Clin Endocrinol Metab 102 (6): 2069-2074, 2017.28323957
Machens A, Lorenz K, Weber F, et al.: Lymph node metastasis in hereditary medullary thyroid cancer is independent of the underlying RET germline mutation. Eur J Surg Oncol 47 (4): 920-923, 2021.32962888
Eng C, Smith DP, Mulligan LM, et al.: Point mutation within the tyrosine kinase domain of the RET proto-oncogene in multiple endocrine neoplasia type 2B and related sporadic tumours. Hum Mol Genet 3 (2): 237-41, 1994.7911697 94272459
Hofstra RM, Landsvater RM, Ceccherini I, et al.: A mutation in the RET proto-oncogene associated with multiple endocrine neoplasia type 2B and sporadic medullary thyroid carcinoma. Nature 367 (6461): 375-6, 1994.7906866
Carlson KM, Dou S, Chi D, et al.: Single missense mutation in the tyrosine kinase catalytic domain of the RET protooncogene is associated with multiple endocrine neoplasia type 2B. Proc Natl Acad Sci U S A 91 (4): 1579-83, 1994.7906417 94151373
Gimm O, Marsh DJ, Andrew SD, et al.: Germline dinucleotide mutation in codon 883 of the RET proto-oncogene in multiple endocrine neoplasia type 2B without codon 918 mutation. J Clin Endocrinol Metab 82 (11): 3902-4, 1997.9360560 98025012
Smith DP, Houghton C, Ponder BA: Germline mutation of RET codon 883 in two cases of de novo MEN 2B. Oncogene 15 (10): 1213-7, 1997.9294615 97440308
Eng C, Mulligan LM, Healey CS, et al.: Heterogeneous mutation of the RET proto-oncogene in subpopulations of medullary thyroid carcinoma. Cancer Res 56 (9): 2167-70, 1996.8616867 96197529
Cranston AN, Carniti C, Oakhill K, et al.: RET is constitutively activated by novel tandem mutations that alter the active site resulting in multiple endocrine neoplasia type 2B. Cancer Res 66 (20): 10179-87, 2006.17047083
Miyauchi A, Futami H, Hai N, et al.: Two germline missense mutations at codons 804 and 806 of the RET proto-oncogene in the same allele in a patient with multiple endocrine neoplasia type 2B without codon 918 mutation. Jpn J Cancer Res 90 (1): 1-5, 1999.10076558
Kameyama K, Okinaga H, Takami H: RET oncogene mutations in 75 cases of familial medullary thyroid carcinoma in Japan. Biomed Pharmacother 58 (6-7): 345-7, 2004 Jul-Aug.15271413
Iwashita T, Murakami H, Kurokawa K, et al.: A two-hit model for development of multiple endocrine neoplasia type 2B by RET mutations. Biochem Biophys Res Commun 268 (3): 804-8, 2000.10679286
Menko FH, van der Luijt RB, de Valk IA, et al.: Atypical MEN type 2B associated with two germline RET mutations on the same allele not involving codon 918. J Clin Endocrinol Metab 87 (1): 393-7, 2002.11788682
Eng C, Clayton D, Schuffenecker I, et al.: The relationship between specific RET proto-oncogene mutations and disease phenotype in multiple endocrine neoplasia type 2. International RET mutation consortium analysis. JAMA 276 (19): 1575-9, 1996.8918855 97078730
Mulligan LM, Eng C, Healey CS, et al.: Specific mutations of the RET proto-oncogene are related to disease phenotype in MEN 2A and FMTC. Nat Genet 6 (1): 70-4, 1994.7907913 94184369
Seri M, Celli I, Betsos N, et al.: A Cys634Gly substitution of the RET proto-oncogene in a family with recurrence of multiple endocrine neoplasia type 2A and cutaneous lichen amyloidosis. Clin Genet 51 (2): 86-90, 1997.9111993 97266199
Yip L, Cote GJ, Shapiro SE, et al.: Multiple endocrine neoplasia type 2: evaluation of the genotype-phenotype relationship. Arch Surg 138 (4): 409-16; discussion 416, 2003.12686527 22572550
Rothberg AE, Raymond VM, Gruber SB, et al.: Familial medullary thyroid carcinoma associated with cutaneous lichen amyloidosis. Thyroid 19 (6): 651-5, 2009.19445625
Eng C, Mulligan LM, Smith DP, et al.: Low frequency of germline mutations in the RET proto-oncogene in patients with apparently sporadic medullary thyroid carcinoma. Clin Endocrinol (Oxf) 43 (1): 123-7, 1995.7641404 95368857
Bolino A, Schuffenecker I, Luo Y, et al.: RET mutations in exons 13 and 14 of FMTC patients. Oncogene 10 (12): 2415-9, 1995.7784092 95303511
Boccia LM, Green JS, Joyce C, et al.: Mutation of RET codon 768 is associated with the FMTC phenotype. Clin Genet 51 (2): 81-5, 1997.9111992 97266198
Lesueur F, Cebrian A, Cranston A, et al.: Germline homozygous mutations at codon 804 in the RET protooncogene in medullary thyroid carcinoma/multiple endocrine neoplasia type 2A patients. J Clin Endocrinol Metab 90 (6): 3454-7, 2005.15741265
Shannon KE, Gimm O, Hinze R: Germline V804M mutation in the RET protooncogene in 2 apparently sporadic cases of MTC presenting in the 7th decade of life. The Journal of Endocrine Genetics 1 (1): 39-46, 1999.
Raue F, Frank-Raue K: Genotype-phenotype relationship in multiple endocrine neoplasia type 2. Implications for clinical management. Hormones (Athens) 8 (1): 23-8, 2009 Jan-Mar.19269918
Mulligan LM, Marsh DJ, Robinson BG, et al.: Genotype-phenotype correlation in multiple endocrine neoplasia type 2: report of the International RET Mutation Consortium. J Intern Med 238 (4): 343-6, 1995.7595170 96069650
Moers AM, Landsvater RM, Schaap C, et al.: Familial medullary thyroid carcinoma: not a distinct entity? Genotype-phenotype correlation in a large family. Am J Med 101 (6): 635-41, 1996.9003111 97156721
Niccoli-Sire P, Murat A, Rohmer V, et al.: Familial medullary thyroid carcinoma with noncysteine ret mutations: phenotype-genotype relationship in a large series of patients. J Clin Endocrinol Metab 86 (8): 3746-53, 2001.11502806
Machens A, Ukkat J, Brauckhoff M, et al.: Advances in the management of hereditary medullary thyroid cancer. J Intern Med 257 (1): 50-9, 2005.15606376
Mukherjee S, Zakalik D: RET codon 804 mutations in multiple endocrine neoplasia 2: genotype-phenotype correlations and implications in clinical management. Clin Genet 79 (1): 1-16, 2011.20497437
Xu JY, Grubbs EG, Waguespack SG, et al.: Medullary Thyroid Carcinoma Associated with Germline RETK666N Mutation. Thyroid 26 (12): 1744-1751, 2016.27673361
Erlic Z, Hoffmann MM, Sullivan M, et al.: Pathogenicity of DNA variants and double mutations in multiple endocrine neoplasia type 2 and von Hippel-Lindau syndrome. J Clin Endocrinol Metab 95 (1): 308-13, 2010.19906784
Toledo RA, Hatakana R, Lourenço DM, et al.: Comprehensive assessment of the disputed RET Y791F variant shows no association with medullary thyroid carcinoma susceptibility. Endocr Relat Cancer 22 (1): 65-76, 2015.25425582
Høxbroe Michaelsen S, Ornstrup MJ, Poulsen MM, et al.: Long-term follow-up of RET Y791F carriers in Denmark 1994-2017: A National Cohort Study. J Surg Oncol 119 (6): 687-693, 2019.30644554
Siqueira DR, Ceolin L, Ferreira CV, et al.: Role of RET genetic variants in MEN2-associated pheochromocytoma. Eur J Endocrinol 170 (6): 821-8, 2014.24616415
Ceolin L, Siqueira DR, Romitti M, et al.: Molecular basis of medullary thyroid carcinoma: the role of RET polymorphisms. Int J Mol Sci 13 (1): 221-39, 2012.22312249
Robledo M, Gil L, Pollán M, et al.: Polymorphisms G691S/S904S of RET as genetic modifiers of MEN 2A. Cancer Res 63 (8): 1814-7, 2003.12702567
Kaczmarek-Ryś M, Ziemnicka K, Pławski A, et al.: Modifying impact of RET gene haplotypes on medullary thyroid carcinoma clinical course. Endocr Relat Cancer 25 (4): 421-436, 2018.29386230
Margraf RL, Crockett DK, Krautscheid PM, et al.: Multiple endocrine neoplasia type 2 RET protooncogene database: repository of MEN2-associated RET sequence variation and reference for genotype/phenotype correlations. Hum Mutat 30 (4): 548-56, 2009.19177457

## Screening and Surveillance in Multiple Endocrine Neoplasia Type 2 (MEN2)

### Screening and Surveillance for Pheochromocytomas (PHEOs)

The presence of a functioning PHEO can be excluded by appropriate biochemical screening before thyroidectomy in any patient with multiple endocrine neoplasia type 2A (MEN2A) or multiple endocrine neoplasia type 2B (MEN2B). However, childhood PHEOs are rare in MEN2.[1] Individuals with American Thyroid Association (ATA)-Highest Risk (HST) or ATA-High Risk (H) RET pathogenic variants have an increased risk of PHEO (up to 50%).[2] The ATA recommends that annual screening for PHEO be considered by age 11 years in patients with ATA-HST or ATA-H RET pathogenic variants.[1] The ATA recommends that patients with ATA-Moderate Risk (MOD) RET pathologic variants have periodic screening for PHEO beginning by age 16 years.[1] Magnetic resonance imaging or other imaging tests may be ordered only if the biochemical results are abnormal.[3-5] Studies of individuals with sporadic or hereditary PHEO (including, but not limited to, individuals with MEN2) have suggested that measurement of catecholamine metabolites, specifically plasma-free metanephrines and/or urinary fractionated metanephrines, provides a higher diagnostic sensitivity than urinary catecholamines because of the episodic nature of catecholamine excretion.[5-14] Several reviews provide a succinct summary of the biochemical diagnosis, localization, and management of PHEO.[6,15]

Level of evidence: 4

### Screening and Surveillance for Hyperparathyroidism

Primary hyperparathyroidism is variably reported in MEN2A, with rates ranging from 2% to 35%.[16] However, large, multicenter studies suggest rates in the lower half of this range. MEN2-related hyperparathyroidism is generally associated with mild, often asymptomatic hypercalcemia early in the natural history of the disease, which, left untreated, may become symptomatic.[17] Those with higher risk pathogenic variants are more likely to develop hyperparathyroidism, with an earlier age of onset.[16] Childhood hyperparathyroidism is rare in MEN2. Four studies reported a median age of diagnosis between ages 38 and 45 years.[16-19] The ATA provides recommendations for annual screening for hyperparathyroidism,[1] with screening beginning by age 11 years in carriers of ATA-HST and ATA-H pathogenic variants and by age 16 years for carriers of ATA-MOD RET pathogenic variants.[1] Testing typically includes albumin-corrected calcium or ionized serum calcium, with or without intact parathyroid hormone measurement. While cure rates for hyperparathyroidism are high, recurrence can occur decades after initial treatment.[16]

Level of evidence: 4

### References

Wells SA, Asa SL, Dralle H, et al.: Revised American Thyroid Association guidelines for the management of medullary thyroid carcinoma. Thyroid 25 (6): 567-610, 2015.25810047
Quayle FJ, Fialkowski EA, Benveniste R, et al.: Pheochromocytoma penetrance varies by RET mutation in MEN 2A. Surgery 142 (6): 800-5; discussion 805.e1, 2007.18063059
Modigliani E, Vasen HM, Raue K, et al.: Pheochromocytoma in multiple endocrine neoplasia type 2: European study. The Euromen Study Group. J Intern Med 238 (4): 363-7, 1995.7595173 96069653
Wells SA, Donis-Keller H: Current perspectives on the diagnosis and management of patients with multiple endocrine neoplasia type 2 syndromes. Endocrinol Metab Clin North Am 23 (1): 215-28, 1994.7913027 94298795
Lenders JW, Duh QY, Eisenhofer G, et al.: Pheochromocytoma and paraganglioma: an endocrine society clinical practice guideline. J Clin Endocrinol Metab 99 (6): 1915-42, 2014.24893135
Pacak K, Eisenhofer G, Ahlman H, et al.: Pheochromocytoma: recommendations for clinical practice from the First International Symposium. October 2005. Nat Clin Pract Endocrinol Metab 3 (2): 92-102, 2007.17237836
Gardet V, Gatta B, Simonnet G, et al.: Lessons from an unpleasant surprise: a biochemical strategy for the diagnosis of pheochromocytoma. J Hypertens 19 (6): 1029-35, 2001.11403350
Gerlo EA, Sevens C: Urinary and plasma catecholamines and urinary catecholamine metabolites in pheochromocytoma: diagnostic value in 19 cases. Clin Chem 40 (2): 250-6, 1994.7906208
Guller U, Turek J, Eubanks S, et al.: Detecting pheochromocytoma: defining the most sensitive test. Ann Surg 243 (1): 102-7, 2006.16371743
Lenders JW, Pacak K, Walther MM, et al.: Biochemical diagnosis of pheochromocytoma: which test is best? JAMA 287 (11): 1427-34, 2002.11903030
Raber W, Raffesberg W, Bischof M, et al.: Diagnostic efficacy of unconjugated plasma metanephrines for the detection of pheochromocytoma. Arch Intern Med 160 (19): 2957-63, 2000.11041903
Sawka AM, Jaeschke R, Singh RJ, et al.: A comparison of biochemical tests for pheochromocytoma: measurement of fractionated plasma metanephrines compared with the combination of 24-hour urinary metanephrines and catecholamines. J Clin Endocrinol Metab 88 (2): 553-8, 2003.12574179
Unger N, Pitt C, Schmidt IL, et al.: Diagnostic value of various biochemical parameters for the diagnosis of pheochromocytoma in patients with adrenal mass. Eur J Endocrinol 154 (3): 409-17, 2006.16498054
Därr R, Kuhn M, Bode C, et al.: Accuracy of recommended sampling and assay methods for the determination of plasma-free and urinary fractionated metanephrines in the diagnosis of pheochromocytoma and paraganglioma: a systematic review. Endocrine 56 (3): 495-503, 2017.28405881
Pacak K, Ilias I, Adams KT, et al.: Biochemical diagnosis, localization and management of pheochromocytoma: focus on multiple endocrine neoplasia type 2 in relation to other hereditary syndromes and sporadic forms of the tumour. J Intern Med 257 (1): 60-8, 2005.15606377
Holm M, Vestergaard P, Poulsen MM, et al.: Primary Hyperparathyroidism in Multiple Endocrine Neoplasia Type 2A in Denmark 1930–2021: A Nationwide Population-Based Retrospective Study. Cancers (Basel) 15 (7): , 2023.37046785
Kraimps JL, Denizot A, Carnaille B, et al.: Primary hyperparathyroidism in multiple endocrine neoplasia type IIa: retrospective French multicentric study. Groupe d'Etude des Tumeurs á Calcitonine (GETC, French Calcitonin Tumors Study Group), French Association of Endocrine Surgeons. World J Surg 20 (7): 808-12; discussion 812-3, 1996.8678955 96427227
Raue F, Kraimps JL, Dralle H, et al.: Primary hyperparathyroidism in multiple endocrine neoplasia type 2A. J Intern Med 238 (4): 369-73, 1995.7595174
Milos IN, Frank-Raue K, Wohllk N, et al.: Age-related neoplastic risk profiles and penetrance estimations in multiple endocrine neoplasia type 2A caused by germ line RET Cys634Trp (TGC>TGG) mutation. Endocr Relat Cancer 15 (4): 1035-41, 2008.18794325

## Interventions in Multiple Endocrine Neoplasia Type 2 (MEN2)

### Risk-Reducing Thyroidectomy

For more information about risk stratification, see the Genotype-Phenotype Correlations and Risk Stratification in MEN2 section.

Risk-reducing thyroidectomy (also referred to as early thyroidectomy and previously referred to as prophylactic thyroidectomy) is the oncological treatment of choice for patients with MEN2. Children with the M918T RET pathogenic variant may benefit from a thyroidectomy in the first year of life, perhaps in the first months of life.[1] Likewise, children with American Thyroid Association (ATA)-High Risk (H) category RET pathogenic variants may undergo risk-reducing thyroidectomy around age 5 years or earlier, based on serum calcitonin levels. The ATA recommends that children in the ATA-Moderate Risk (MOD) category have a physical examination, ultrasonography of the neck, and measurement of serum calcitonin beginning around age 5 years, as these tumors may have later onset but are similarly aggressive once this is taken into account.[1,2] The absence of an abnormal calcitonin level may prompt continued measurement every 6 to 12 months.

A multidisciplinary team caring for the patient, including the pediatrician, pediatric endocrinologist, and surgeon should determine the timing of surgery in conjunction with the child’s parents based on the trend in serum calcitonin levels, ultrasonographic findings, preference of the family, and experience of the treating physicians.[1]

In children with some ATA-H or ATA-MOD RET pathogenic variants, earlier studies have suggested that basal and pentagastrin-stimulated calcitonin levels could be used to determine the timing of total thyroidectomy.[3-6] These findings suggest that surgery may be safely delayed in carriers of an RET pathogenic variant until basal or stimulated calcitonin levels increase on routine testing. The benefits of this approach are particularly noteworthy in the younger population of pathogenic variant carriers, as a delay in surgery until the patient is older may reduce the risk of surgical complications. However, pentagastrin is not readily available. A large study of 2,740 children aged 16 years and under has provided data on age-specific reference ranges for calcitonin levels in younger children that may assist in decision making.[7] Because some calcitonin assays may be more sensitive than others,[5] attention to the type of testing, as well as calcitonin levels must be considered. However, normal preoperative basal calcitonin does not exclude the possibility of the patient having medullary thyroid cancer (MTC).[8]

For patients with RET germline variants, older age at risk-reducing thyroidectomy has been significantly associated with a higher risk of persistent or recurrent disease.[9,10] Even micro MTC carries a risk of biochemical recurrence.[10] Consistent with this finding, a study of young, clinically asymptomatic individuals with multiple endocrine neoplasia type 2A (MEN2A) found a lower incidence of persistent or recurrent disease in patients who had thyroidectomy earlier in life (younger than age 8 y) and who had no evidence of lymph node metastases.[11] Several studies have found a significantly lower rate of invasive or metastatic MTC among those who undergo surgery at an earlier age than among those who undergo surgery at a later age.[12] For patients with the most aggressive M918T RET variant, cure is exceptional if surgery is performed after age 4 years.[3,13] Together, these findings are consistent with more favorable outcomes for patients undergoing risk-reducing thyroidectomy at a young age.[14]

While performing thyroidectomy before biochemical evidence of disease exists (normal preoperative calcitonin) may reduce the risk of recurrent disease, postoperative and lifelong surveillance strategies are often needed. These strategies may depend on the final pathological findings (if carcinoma was present and whether it was microscopic disease or macroscopic disease).[1,15] One study found that 10% of patients with MEN2A undergoing thyroidectomy developed recurrent disease, based on initially undetectable basal and stimulated calcitonin levels (<2 pg/mL) that became positive 5 to 10 years after surgery.[11] Only 2% of patients had residual disease after risk-reducing surgery as assessed by a persistently elevated basal or stimulated calcitonin.[11] Since screening and surveillance in second-generation pediatric patients with multiple endocrine neoplasia type 2B (MEN2B) begin earlier, timing of surgical intervention has decreased the incidence of lymph node metastases. This finding encourages the role of personalized extent of surgery intervention and thyroidectomy alone, without ipsilateral central neck dissection can be adequate for cure in 97% of patients.[16]

Age at MTC diagnosis is variable. Reports have documented MTC metastasis in MEN2B cases before age 3 years and in MEN2A cases with ATA-H or ATA-MOD RET variants before age 6 years.[3,11,13,17] Conversely, some families with the familial medullary thyroid cancer subtype of MEN2A did not show signs of disease until midlife. In addition, some elderly relatives who carried the RET variant never developed MTC.[18] Additional data have suggested that some ATA-MOD RET variants (which were previously thought to be more indolent) may be as aggressive as ATA-H RET variants, but they are associated with delayed disease onset.[2,19]

Level of evidence: 3aii

### Treatment for MEN2-Related Medullary Thyroid Cancer (MTC)

For general information about MTC treatment, see the MTC section in Thyroid Cancer Treatment. For more information about treatment for children with MEN2, see the Childhood MEN Syndromes Treatment summary.

#### Therapeutic thyroidectomy

The standard treatment for adults with MTC is surgical removal of the entire thyroid gland, including the posterior capsule and central lymph node dissection.[1] A therapeutic central neck dissection is typically performed if there is radiographic evidence of metastatic lymph node involvement or if the serum calcitonin level is higher than 40 pg/mL.[1] The decision to perform a risk-reducing central neck dissection is generally made based on multiple factors such as patient age, pathogenic variant, presence of concomitant primary hyperparathyroidism (PHPT), and the viability of in situ parathyroid glands.[1] Selective autotransplantation of parathyroid glands that were devascularized during a risk-reducing thyroidectomy and/or central neck clearance is recommended, but risk-reducing autotransplantation is not suggested.[1] A selective approach also significantly reduces the detrimental outcome of hypoparathyroidism.[20]

The MEN2B RET variant M918T is associated with approximately 100% incidence of MTC in the first years of life [13] and is considered the most aggressive MEN2 phenotype. In patients with MEN2A, the ATA-H high-risk codon 634 pathogenic variant is much more likely to be associated with invasive or metastatic MTC and development of persistent or recurrent disease than pathogenic variants in codons 804, 618, or 620.[12] One series of 503 at-risk individuals with ATA-MOD category pathogenic variants (including codons 533, 609, 611, 618, 620, 791, and 804) reported cumulative penetrance rates, median time to MTC, and positive predictive value of preoperative calcitonin.[4] The risk of developing MTC by age 50 years ranged from 18% to 95%, depending on the codon, with codon 620 having the highest penetrance. Most patients with MTC had node-negative disease, confirming the more indolent disease course previously reported with these pathogenic variants. Although an elevated preoperative calcitonin level strongly predicted the presence of MTC, relatively high false-negative rates (low normal calcitonin levels with MTC) were noted for many of the codons. This information is useful when counseling carriers of pathogenic variants regarding the extent of surgical resection.

The ATA recommends compartment-directed lymph node dissection for local or regional disease (no evidence of distant metastases) in the following situations:[1]

- If there is no evidence of neck nodal metastases by ultrasonography in biopsy-proven thyroid disease, risk-reducing central neck dissection should be performed concomitant with initial thyroidectomy.
- If nodal disease is present in either the central or lateral neck, a compartment-oriented lateral neck dissection of the ipsilateral side should be performed.
- If nodal disease is present and basal calcitonin levels are greater than 200 pg/mL, then consider contralateral lateral neck dissection.

Although basal calcitonin levels may not be able to identify all patients with MTC preoperatively, this test has utility as a predictor of postoperative remission, lymph node metastases, and distant metastases.[21] In one study of 224 patients from a single institution, preoperative basal calcitonin levels greater than 500 pg/mL predicted failure to achieve biochemical remission.[21] The authors of this study found that nodal metastases started appearing at basal calcitonin levels of 40 pg/mL (normal, <10 pg/mL). In node-positive patients, distant metastases emerged at basal calcitonin levels of 150 pg/mL to 400 pg/mL. Another study of 308 RET pathogenic variant carriers found that a normal basal preoperative calcitonin excluded the presence of lymph node metastases (negative predictive value, 100%).[6] Therefore, the preoperative basal calcitonin level is a useful prognostic indicator and may help guide the surgical approach.

Level of evidence (therapeutic thyroidectomy): 3dii

Level of evidence (central neck dissection): 4

##### Prognosis

Structural and metastatic MTC recurrence is common in germline RET carriers. Recurrence can happen up to 20 years after initial treatment. However, overall survival (OS) is generally favorable, with one study citing an OS rate of 92% after 10 years.[22]

##### Hormone replacement therapy after total thyroidectomy

Patients who have had total thyroidectomy require lifelong thyroid hormone replacement therapy. Medication dosing is age-dependent, and treatment may be initiated based on ideal body weight. For healthy adults aged 60 years and younger (without cardiac disease), a reasonable starting dose is 1.6 µg/kg to 1.8 µg/kg, given once daily.[23] Older patients may require 20% to 30% less thyroid hormone than younger patients.[24] Children metabolize thyroxine (T4) more rapidly than adults and require higher replacement by body weight. Depending on the age of the child, the amount of T4 replacement can range from 2 µg/kg to 6 µg/kg.[25] However, T4 replacement is preferred over suppressive therapy. Since C-cell tumors are not dependent on thyroid-stimulating hormone (TSH) to grow, T4 therapy for MTC patients may be adjusted to maintain TSH levels that are within the normal reference range. Thyroglobulin measurements may be useful to help adjust and maintain TSH levels within a normal reference range. This can prevent regrowth of remnant thyroid tissue.[26]

#### Adjuvant therapy for MTC

Chemotherapy and radiation therapy are generally not effective against MTC.[27-29] Targeted molecular therapies are being explored to manage MTC. RET inhibitors and multikinase inhibitors are being used to block RET activity.

Two U.S. Food and Drug Administration (FDA)–approved RET inhibitors (pralsetinib and selpercatinib) are available for patients with MTC who have a RET single nucleotide variant. These RET inhibitors are also available for patients who have differentiated thyroid cancers with a RET fusion. A multicenter, phase I/II trial (ARROW (https://www.cancer.gov/clinicaltrials/NCT03037385)) was conducted to evaluate the efficacy of pralsetinib in patients with RET-mutant MTC with or without prior treatment with vandetanib or cabozantinib. Among 55 patients who were previously treated with a multikinase inhibitor, the overall response rate was 60% (95% confidence interval [CI], 46%–73%) and the 1-year progression-free survival (PFS) rate was 75% (95% CI, 63%–86%). Among 21 treatment-naïve patients, the overall response rate was 71% (95% CI, 48%–89%) and the 1-year PFS rate was 81% (95% CI, 63%–98%).[30] A similar phase I/II trial (LIBRETTO (https://www.cancer.gov/clinicaltrials/NCT03157128)) examined the efficacy of selpercatinib in patients with RET-mutant MTC with or without prior treatment with vandetanib or cabozantinib. Among 55 patients who were previously treated with a multikinase inhibitor, 69% had an objective response (95% CI, 55%–81%); the 1-year PFS rate was 82% (95% CI, 69%–90%). Among 88 treatment-naïve patients, the objective response rate was 73% (95% CI, 62%–82%), and the 1-year PFS rate was 92% (95% CI, 82%–97%).[31]

The use of vandetanib and cabozantinib are FDA-approved for adult patients with progressive metastatic MTC who are ineligible for surgery. A phase III study found that PFS was longer in adults who received vandetanib than in those who received placebo.[32] A phase I/phase II study of children with MEN2B found an objective partial response rate of 47% with vandetanib.[33] Subsequent follow-up analysis of this cohort revealed that a partial response was seen in 10 of 17 patients; stable disease was seen in an additional 6 individuals. Median PFS was 6.7 years.[34] A double-blind phase III trial that compared cabozantinib with placebo in 330 patients with progressive MTC showed an improvement in median PFS across all subgroups.[35,36] In this trial, patients who had pathogenic variants, including RET or RAS, were more likely to have a prolonged PFS compared with patients lacking both pathogenic variants.[37] Prospective studies may further clarify whether particular pathogenic variants can be used to guide therapy. Neither cabozantinib nor vandetanib has demonstrated improved OS.[32,35,36] Importantly, these agents are not effective at inhibiting some MEN2 RET variants, specifically those at codon 804,[38] making genotype an important consideration for treatment with RET inhibitors. Further, a 2018 study demonstrated the development of resistance to these agents through somatic acquisition of a V804M variant in RET.[39] Finally, multikinase inhibitors are associated with significant toxicities, possibly due to their off-target effects on other kinases.[40] Other multikinase inhibitors for targeting RET are being studied in clinical trials; however, they may provide only limited advantages over vandetanib and cabozantinib. For these reasons, ongoing studies are focusing on the development of selective RET inhibitors with fewer off-target effects that are able to block the activity of all RET variant forms and the use of combination therapy in MTC. Future studies will likely focus on the development of new targeted therapies and the use of combination therapy in MTC.[41,42]

Level of evidence (pralsetinib): 4

Level of evidence (selpercatinib): 3dii

Level of evidence (vandetanib): 2

Level of evidence (cabozantinib): 1

For more information, see Thyroid Cancer Treatment.

### Treatment for MEN2-Related Pheochromocytoma (PHEO)

A cognitive shift has occurred in the field regarding the risks and benefits of whole organ resection. This shift is especially relevant for endocrine glands that are difficult to manage postresection and may require replacement therapy. PHEO may be either unilateral or bilateral in patients with MEN2. Laparoscopic adrenalectomy (anterior or posterior) is the recommended approach after appropriate preoperative medical blockade for the treatment of unilateral PHEO.[1,43-45] The risks, benefits, and potential of life-threatening adrenal insufficiency should be considered at the time of the initial operative planning.

If disease appears unilateral, the contralateral gland may develop metachronous disease in 17% to 72% of patients.[46,47] In a series of RET p.Cys634 variant carriers, only 1 in 5 developed a second ipsilateral PHEO after a follow-up period of 8 to 11 years when the cortical preservation technique was used. This technique allows patients to continue making steroid hormones on their own, which makes it a viable surgical option.[48] In one series, 23 patients with a unilateral PHEO and a macroscopically normal contralateral adrenal gland were treated initially with unilateral adrenalectomy.[49] A PHEO developed within the retained gland in 12 (52%) of these patients, occurring a mean of 11.9 years after initial surgery. During follow-up, no patient experienced a hypertensive crisis or other problems attributable to an undiagnosed PHEO. In contrast, 10 of 43 patients (23%) treated with bilateral adrenalectomy experienced at least one episode of acute adrenal insufficiency. Thus, unilateral adrenalectomy is a reasonable management strategy for unilateral PHEO in patients with MEN2.[1,50,51] Many experts suggest considering a cortical-sparing technique for a suspected unilateral PHEO, even if it is the patient's first operation.[1,52] For more information, see the section on Interventions in Genetics of Endocrine and Neuroendocrine Neoplasias. Because of the risk of contralateral gland disease, periodic surveillance (serum or urinary catecholamine measurements) for the development of disease in the contralateral adrenal gland is recommended.[1]

Regarding the operative approach, several studies found posterior retroperitoneoscopic adrenalectomy to be safe and effective, with very low mortality and a low rate of minor complications. Conversion to open surgery was rarely required.[46,53-59]

There are other clinical situations (besides surgery) in which patients with catecholamine excess face special risks. An example is the healthy at-risk female patient who becomes pregnant.[60] Pregnancy, labor, and delivery can prompt a hypertensive crisis in individuals with an undetected PHEO. Pregnant patients who are found to have catecholamine excess require pharmacotherapy before delivery.[61]

Level of evidence: 3a

### Treatment for MEN2-Related Hyperparathyroidism

Most patients with MEN2-related parathyroid disease are either asymptomatic or diagnosed incidentally during preoperative planning or at the time of thyroidectomy. Typically, hypercalcemia (when present) is mild, although it may be associated with increased urinary excretion of calcium and nephrolithiasis. As a consequence, the indications for surgical intervention are generally similar to those recommended for patients with sporadic PHPT.[43] In general, fewer than four of the parathyroid glands are involved at the time of detected abnormalities in calcium metabolism.[1]

Treatment of hyperparathyroidism typically employs some surgical removal of the involved glands. Cure of hyperparathyroidism was achieved surgically in 89% of one large series of MEN2A patients;[62] however, 22% of resected patients in this study developed postoperative hypoparathyroidism. Five patients (9%) had recurrent hyperparathyroidism. This series used various surgical techniques, including total parathyroidectomy with autotransplantation to the nondominant forearm (4 of 11 patients [36%] developed postoperative hypoparathyroidism), subtotal parathyroidectomy (6 of 12 patients [50%] developed hypoparathyroidism), and resection only of glands that were macroscopically enlarged (3 of 29 patients [10%] developed hypoparathyroidism). These data indicate that excision of only parathyroid glands that are enlarged appears to be sufficient therapy in most cases.

Some investigators have suggested using the MEN2 subtype to decide where to place the parathyroid glands that are identified at the time of thyroid surgery. For patients with MEN2B in whom the risk of parathyroid disease is quite low, the parathyroid glands may be left in situ in the neck. For adult patients with MEN2A, in whom the glands have been inadvertently devascularized during primary surgical treatment for MTC, it is suggested that the glands needing reimplantation be implanted in the nondominant forearm. This approach minimizes the need for further surgical intervention in the neck should hyperparathyroidism develop or recur.[1,20,63,64] For children, the risk/benefit ratio must be carefully weighed to avoid overtreatment and subsequent aparathyroidism.[65] It is important to confirm that the remnant or autotransplanted parathyroid tissue is functional.[1,44,66,67]

Medical therapy of hyperparathyroidism has gained popularity with the advent of calcimimetics, agents that sensitize the calcium-sensing receptors on the parathyroid glands to circulating calcium levels and thereby reduce circulating parathyroid hormone (PTH) levels. In a randomized, double-blind, placebo-controlled trial, cinacalcet hydrochloride was shown to induce sustained reduction in circulating calcium and PTH levels in patients with PHPT.[68] In patients who are high-risk surgical candidates, those with recurrent hyperparathyroidism, or those in whom life expectancy is limited, medical therapy may be a viable alternative to a surgical approach.[1] Consequences of long-term therapy with cinacalcet are unknown.

Level of evidence: 3di

### References

Wells SA, Asa SL, Dralle H, et al.: Revised American Thyroid Association guidelines for the management of medullary thyroid carcinoma. Thyroid 25 (6): 567-610, 2015.25810047
Voss RK, Feng L, Lee JE, et al.: Medullary Thyroid Carcinoma in MEN2A: ATA Moderate- or High-Risk RET Mutations Do Not Predict Disease Aggressiveness. J Clin Endocrinol Metab 102 (8): 2807-2813, 2017.28609830
Elisei R, Romei C, Renzini G, et al.: The timing of total thyroidectomy in RET gene mutation carriers could be personalized and safely planned on the basis of serum calcitonin: 18 years experience at one single center. J Clin Endocrinol Metab 97 (2): 426-35, 2012.22162466
Rich TA, Feng L, Busaidy N, et al.: Prevalence by age and predictors of medullary thyroid cancer in patients with lower risk germline RET proto-oncogene mutations. Thyroid 24 (7): 1096-106, 2014.24617864
Qi XP, Zhao JQ, Du ZF, et al.: Prophylactic thyroidectomy for MEN 2-related medullary thyroid carcinoma based on predictive testing for RET proto-oncogene mutation and basal serum calcitonin in China. Eur J Surg Oncol 39 (9): 1007-12, 2013.23849459
Machens A, Lorenz K, Dralle H: Individualization of lymph node dissection in RET (rearranged during transfection) carriers at risk for medullary thyroid cancer: value of pretherapeutic calcitonin levels. Ann Surg 250 (2): 305-10, 2009.19638924
Castagna MG, Fugazzola L, Maino F, et al.: Reference range of serum calcitonin in pediatric population. J Clin Endocrinol Metab 100 (5): 1780-4, 2015.25955324
Kuhlen M, Frühwald MC, Dunstheimer DPA, et al.: Revisiting the genotype-phenotype correlation in children with medullary thyroid carcinoma: A report from the GPOH-MET registry. Pediatr Blood Cancer 67 (4): e28171, 2020.31925938
Schreinemakers JM, Vriens MR, Valk GD, et al.: Factors predicting outcome of total thyroidectomy in young patients with multiple endocrine neoplasia type 2: a nationwide long-term follow-up study. World J Surg 34 (4): 852-60, 2010.20063095
Torresan F, Censi S, Pennelli G, et al.: Prophylactic and Early Thyroidectomy in RET Germline Mutation Carriers in Pediatric and Adult Population: Long-Term Outcomes of a Series of 63 Patients. Cancers (Basel) 14 (24): , 2022.36551711
Skinner MA, Moley JA, Dilley WG, et al.: Prophylactic thyroidectomy in multiple endocrine neoplasia type 2A. N Engl J Med 353 (11): 1105-13, 2005.16162881
Szinnai G, Meier C, Komminoth P, et al.: Review of multiple endocrine neoplasia type 2A in children: therapeutic results of early thyroidectomy and prognostic value of codon analysis. Pediatrics 111 (2): E132-9, 2003.12563086 22451146
Brauckhoff M, Machens A, Lorenz K, et al.: Surgical curability of medullary thyroid cancer in multiple endocrine neoplasia 2B: a changing perspective. Ann Surg 259 (4): 800-6, 2014.23979292
Ordóñez J, Pérez-Egido L, García-Casillas MA, et al.: Management and results of thyroidectomies in pediatric patients with MEN 2 syndrome. J Pediatr Surg 56 (11): 2058-2061, 2021.33814184
Franc S, Niccoli-Sire P, Cohen R, et al.: Complete surgical lymph node resection does not prevent authentic recurrences of medullary thyroid carcinoma. Clin Endocrinol (Oxf) 55 (3): 403-9, 2001.11589685
Machens A, Lorenz K, Weber F, et al.: Prophylactic neck surgery for second-generation multiple endocrine neoplasia type 2B. Eur J Surg Oncol 47 (4): 924-927, 2021.33223415
Zenaty D, Aigrain Y, Peuchmaur M, et al.: Medullary thyroid carcinoma identified within the first year of life in children with hereditary multiple endocrine neoplasia type 2A (codon 634) and 2B. Eur J Endocrinol 160 (5): 807-13, 2009.19240193
Hansen HS, Torring H, Godballe C, et al.: Is thyroidectomy necessary in RET mutations carriers of the familial medullary thyroid carcinoma syndrome? Cancer 89 (4): 863-7, 2000.10951350 20408814
Machens A, Lorenz K, Weber F, et al.: Lymph node metastasis in hereditary medullary thyroid cancer is independent of the underlying RET germline mutation. Eur J Surg Oncol 47 (4): 920-923, 2021.32962888
Moley JF, Skinner M, Gillanders WE, et al.: Management of the Parathyroid Glands During Preventive Thyroidectomy in Patients With Multiple Endocrine Neoplasia Type 2. Ann Surg 262 (4): 641-6, 2015.26366543
Machens A, Schneyer U, Holzhausen HJ, et al.: Prospects of remission in medullary thyroid carcinoma according to basal calcitonin level. J Clin Endocrinol Metab 90 (4): 2029-34, 2005.15634717
Spanheimer PM, Ganly I, Chou J, et al.: Long-Term Oncologic Outcomes After Curative Resection of Familial Medullary Thyroid Carcinoma. Ann Surg Oncol 26 (13): 4423-4429, 2019.31549322
Razvi S, Hostalek U: Therapeutic challenges in the application of serum thyroid stimulating hormone testing in the management of patients with hypothyroidism on replacement thyroid hormone therapy: a review. Curr Med Res Opin 35 (7): 1215-1220, 2019.30648440
Sawin CT, Geller A, Hershman JM, et al.: The aging thyroid. The use of thyroid hormone in older persons. JAMA 261 (18): 2653-5, 1989.2709545
Baloch Z, Carayon P, Conte-Devolx B, et al.: Laboratory medicine practice guidelines. Laboratory support for the diagnosis and monitoring of thyroid disease. Thyroid 13 (1): 3-126, 2003.12625976
Seib CD, Harari A, Conte FA, et al.: Utility of serum thyroglobulin measurements after prophylactic thyroidectomy in patients with hereditary medullary thyroid cancer. Surgery 156 (2): 394-8, 2014.24882762
Moley JF, Debenedetti MK, Dilley WG, et al.: Surgical management of patients with persistent or recurrent medullary thyroid cancer. J Intern Med 243 (6): 521-6, 1998.9681853 98345178
Samaan NA, Schultz PN, Hickey RC: Medullary thyroid carcinoma: prognosis of familial versus nonfamilial disease and the role of radiotherapy. Horm Metab Res Suppl 21: 21-5, 1989.2807151 90034665
Scherübl H, Raue F, Ziegler R: Combination chemotherapy of advanced medullary and differentiated thyroid cancer. Phase II study. J Cancer Res Clin Oncol 116 (1): 21-3, 1990.2312602 90186818
Subbiah V, Hu MI, Wirth LJ, et al.: Pralsetinib for patients with advanced or metastatic RET-altered thyroid cancer (ARROW): a multi-cohort, open-label, registrational, phase 1/2 study. Lancet Diabetes Endocrinol 9 (8): 491-501, 2021.34118198
Wirth LJ, Sherman E, Robinson B, et al.: Efficacy of Selpercatinib in RET-Altered Thyroid Cancers. N Engl J Med 383 (9): 825-835, 2020.32846061
Wells SA, Robinson BG, Gagel RF, et al.: Vandetanib in patients with locally advanced or metastatic medullary thyroid cancer: a randomized, double-blind phase III trial. J Clin Oncol 30 (2): 134-41, 2012.22025146
Fox E, Widemann BC, Chuk MK, et al.: Vandetanib in children and adolescents with multiple endocrine neoplasia type 2B associated medullary thyroid carcinoma. Clin Cancer Res 19 (15): 4239-48, 2013.23766359
Kraft IL, Akshintala S, Zhu Y, et al.: Outcomes of Children and Adolescents with Advanced Hereditary Medullary Thyroid Carcinoma Treated with Vandetanib. Clin Cancer Res 24 (4): 753-765, 2018.29187393
Elisei R, Schlumberger MJ, Müller SP, et al.: Cabozantinib in progressive medullary thyroid cancer. J Clin Oncol 31 (29): 3639-46, 2013.24002501
Schlumberger M, Elisei R, Müller S, et al.: Overall survival analysis of EXAM, a phase III trial of cabozantinib in patients with radiographically progressive medullary thyroid carcinoma. Ann Oncol 28 (11): 2813-2819, 2017.29045520
Sherman SI, Clary DO, Elisei R, et al.: Correlative analyses of RET and RAS mutations in a phase 3 trial of cabozantinib in patients with progressive, metastatic medullary thyroid cancer. Cancer 122 (24): 3856-3864, 2016.27525386
Carlomagno F, Guida T, Anaganti S, et al.: Disease associated mutations at valine 804 in the RET receptor tyrosine kinase confer resistance to selective kinase inhibitors. Oncogene 23 (36): 6056-63, 2004.15184865
Subbiah V, Velcheti V, Tuch BB, et al.: Selective RET kinase inhibition for patients with RET-altered cancers. Ann Oncol 29 (8): 1869-1876, 2018.29912274
Drilon A, Hu ZI, Lai GGY, et al.: Targeting RET-driven cancers: lessons from evolving preclinical and clinical landscapes. Nat Rev Clin Oncol 15 (3): 151-167, 2018.29134959
Redaelli S, Plaza-Menacho I, Mologni L: Novel targeted therapeutics for MEN2. Endocr Relat Cancer 25 (2): T53-T68, 2018.29348306
Mulligan LM: Progress and potential impact of RET kinase targeting in cancer. Expert Rev Proteomics 13 (7): 631-3, 2016.27337654
Brandi ML, Gagel RF, Angeli A, et al.: Guidelines for diagnosis and therapy of MEN type 1 and type 2. J Clin Endocrinol Metab 86 (12): 5658-71, 2001.11739416 21601881
Kloos RT, Eng C, Evans DB, et al.: Medullary thyroid cancer: management guidelines of the American Thyroid Association. Thyroid 19 (6): 565-612, 2009.19469690
Lenders JW, Duh QY, Eisenhofer G, et al.: Pheochromocytoma and paraganglioma: an endocrine society clinical practice guideline. J Clin Endocrinol Metab 99 (6): 1915-42, 2014.24893135
Castinetti F, Qi XP, Walz MK, et al.: Outcomes of adrenal-sparing surgery or total adrenalectomy in phaeochromocytoma associated with multiple endocrine neoplasia type 2: an international retrospective population-based study. Lancet Oncol 15 (6): 648-55, 2014.24745698
Thosani S, Ayala-Ramirez M, Palmer L, et al.: The characterization of pheochromocytoma and its impact on overall survival in multiple endocrine neoplasia type 2. J Clin Endocrinol Metab 98 (11): E1813-9, 2013.24030942
Machens A, Lorenz K, Weber F, et al.: Recurrent ipsilateral pheochromocytoma in carriers of RET p.Cys634 missense mutations. Endocrine 77 (1): 160-167, 2022.35579782
Lairmore TC, Ball DW, Baylin SB, et al.: Management of pheochromocytomas in patients with multiple endocrine neoplasia type 2 syndromes. Ann Surg 217 (6): 595-601; discussion 601-3, 1993.8099474 93282708
Inabnet WB, Caragliano P, Pertsemlidis D: Pheochromocytoma: inherited associations, bilaterality, and cortex preservation. Surgery 128 (6): 1007-11;discussion 1011-2, 2000.11114636
Scholten A, Valk GD, Ulfman D, et al.: Unilateral subtotal adrenalectomy for pheochromocytoma in multiple endocrine neoplasia type 2 patients: a feasible surgical strategy. Ann Surg 254 (6): 1022-7, 2011.22107743
Grubbs EG, Rich TA, Ng C, et al.: Long-term outcomes of surgical treatment for hereditary pheochromocytoma. J Am Coll Surg 216 (2): 280-9, 2013.23317575
Walz MK, Alesina PF, Wenger FA, et al.: Posterior retroperitoneoscopic adrenalectomy--results of 560 procedures in 520 patients. Surgery 140 (6): 943-8; discussion 948-50, 2006.17188142
Walz MK, Alesina PF, Wenger FA, et al.: Laparoscopic and retroperitoneoscopic treatment of pheochromocytomas and retroperitoneal paragangliomas: results of 161 tumors in 126 patients. World J Surg 30 (5): 899-908, 2006.16617419
Perrier ND, Kennamer DL, Bao R, et al.: Posterior retroperitoneoscopic adrenalectomy: preferred technique for removal of benign tumors and isolated metastases. Ann Surg 248 (4): 666-74, 2008.18936580
Behrman SW, Bahr MH, Dickson PV, et al.: The microbiology of secondary and postoperative pancreatic infections: implications for antimicrobial management. Arch Surg 146 (5): 613-9, 2011.21576614
Evans DB, Perrier ND: On "Posterior retroperitoneoscopic adrenalectomy--results of 560 procedures in 520 patients". Surgery 140 (6): 951-2, 2006.17188143
Dickson PV, Jimenez C, Chisholm GB, et al.: Posterior retroperitoneoscopic adrenalectomy: a contemporary American experience. J Am Coll Surg 212 (4): 659-65; discussion 665-7, 2011.21463807
Cabalag MS, Mann GB, Gorelik A, et al.: Posterior retroperitoneoscopic adrenalectomy: outcomes and lessons learned from initial 50 cases. ANZ J Surg 85 (6): 478-82, 2015.24438017
Prete A, Paragliola RM, Salvatori R, et al.: MANAGEMENT OF CATECHOLAMINE-SECRETING TUMORS IN PREGNANCY: A REVIEW. Endocr Pract 22 (3): 357-70, 2016.26536138
Meijs AC, Snel M, Corssmit EPM: Pheochromocytoma/paraganglioma crisis: case series from a tertiary referral center for pheochromocytomas and paragangliomas. Hormones (Athens) 20 (2): 395-403, 2021.33575936
Kraimps JL, Denizot A, Carnaille B, et al.: Primary hyperparathyroidism in multiple endocrine neoplasia type IIa: retrospective French multicentric study. Groupe d'Etude des Tumeurs á Calcitonine (GETC, French Calcitonin Tumors Study Group), French Association of Endocrine Surgeons. World J Surg 20 (7): 808-12; discussion 812-3, 1996.8678955 96427227
Norton JA, Brennan MF, Wells SA Jr: Surgical Management of Hyperparathyroidism. In: Bilezikian JP, Marcus R, Levine MA: The Parathyroids: Basic and Clinical Concepts. Raven Press, 1994, pp 531-551.
Scholten A, Schreinemakers JM, Pieterman CR, et al.: Evolution of surgical treatment of primary hyperparathyroidism in patients with multiple endocrine neoplasia type 2A. Endocr Pract 17 (1): 7-15, 2011 Jan-Feb.20570815
Machens A, Dralle H: Advances in risk-oriented surgery for multiple endocrine neoplasia type 2. Endocr Relat Cancer 25 (2): T41-T52, 2018.28883084
Khan MI, Waguespack SG, Hu MI: Medical management of postsurgical hypoparathyroidism. Endocr Pract 17 (Suppl 1): 18-25, 2011 Mar-Apr.21134871
Stålberg P, Carling T: Familial parathyroid tumors: diagnosis and management. World J Surg 33 (11): 2234-43, 2009.19184636
Peacock M, Bilezikian JP, Klassen PS, et al.: Cinacalcet hydrochloride maintains long-term normocalcemia in patients with primary hyperparathyroidism. J Clin Endocrinol Metab 90 (1): 135-41, 2005.15522938

## Familial and Psychosocial Implications in Multiple Endocrine Neoplasia Type 2 (MEN2)

### Attitudes Toward Preimplantation Genetic Testing

One study explored the attitudes of individuals with multiple endocrine neoplasia type 1 (MEN1) and multiple endocrine neoplasia type 2 (MEN2) toward preimplantation genetic testing (PGT).[1] Ninety-one clinic-based patients from a single U.S. institution who had MEN1 and an MEN1 pathogenic variant or MEN2 and a RET pathogenic variant were surveyed. The study found that 30% (10 of 33) of those with MEN1 and 37% (21 of 57) of those with MEN2 were aware of PGT; 82% (27 of 33) of those with MEN1 and 61% (34 of 56) of those with MEN2 thought PGT should be offered; and 61% (19 of 31) of those with MEN1 and 43% (23 of 54) of those with MEN2 would consider PGT.

### Psychosocial Issues

The psychosocial impact of genetic testing for pathogenic variants in RET has not been extensively studied. Published studies have had limitations such as small sample size and heterogeneous populations, so the clinical relevance of these findings should be interpreted with caution. Identification as the carrier of a pathogenic variant may affect self-esteem, family relationships, and quality of life.[2] In addition, misconceptions about genetic disease may result in familial blame and guilt.[3,4] Several review articles outline both the medical and psychological issues, especially those related to the testing of children.[5-8] The medical value of early screening and risk-reducing treatment are contrasted with the loss of decision-making autonomy for the individual. Lack of agreement between parents about the value and timing of genetic testing and surgery may spur the development of emotional problems within the family.

One study examined levels of psychological distress in the interval between submitting a blood sample and receiving genetic test results. Individuals who experienced the highest level of distress were younger than 25 years, single, and had a history of responding to stressful situations with anxiety.[9] Pathogenic variant–positive parents whose children received negative test results did not seem to be reassured, questioned the reliability of the DNA test, and were eager to continue screening of their noncarrier children.[10]

A small qualitative study (N = 21) evaluated how patients with multiple endocrine neoplasia type 2A and family members conceptualized participation in lifelong high-risk surveillance.[11] Ongoing surveillance was viewed as a reminder of a health threat. Acceptance and incorporation of lifelong surveillance into routine health care was essential for coping with the implications of this condition. Concern about genetic predisposition to cancer was peripheral to concerns about surveillance. Supportive interventions, such as Internet discussion forums, can serve as an ongoing means of addressing informational and support needs of patients with medullary thyroid cancer undergoing lifelong surveillance.[12]

### References

Rich TA, Liu M, Etzel CJ, et al.: Comparison of attitudes regarding preimplantation genetic diagnosis among patients with hereditary cancer syndromes. Fam Cancer 13 (2): 291-9, 2014.24072553
Freyer G, Ligneau B, Schlumberger M, et al.: Quality of life in patients at risk of medullary thyroid carcinoma and followed by a comprehensive medical network: trends for future evaluations. Ann Oncol 12 (10): 1461-5, 2001.11762820
Freyer G, Dazord A, Schlumberger M, et al.: Psychosocial impact of genetic testing in familial medullary-thyroid carcinoma: a multicentric pilot-evaluation. Ann Oncol 10 (1): 87-95, 1999.10076727 99176023
Grosfeld FJ, Lips CJ, Ten Kroode HF, et al.: Psychosocial consequences of DNA analysis for MEN type 2. Oncology (Huntingt) 10 (2): 141-6; discussion 146, 152, 157, 1996.8838257 96435371
Johnston LB, Chew SL, Trainer PJ, et al.: Screening children at risk of developing inherited endocrine neoplasia syndromes. Clin Endocrinol (Oxf) 52 (2): 127-36, 2000.10671936 20191667
MacDonald DJ, Lessick M: Hereditary cancers in children and ethical and psychosocial implications. J Pediatr Nurs 15 (4): 217-25, 2000.10969494 20425587
Grosfeld FJ, Lips CJ, Beemer FA, et al.: Psychological risks of genetically testing children for a hereditary cancer syndrome. Patient Educ Couns 32 (1-2): 63-7, 1997 Sep-Oct.9355573 98017207
Giarelli E: Multiple endocrine neoplasia type 2a (MEN2a): a call for psycho-social research. Psychooncology 11 (1): 59-73, 2002 Jan-Feb.11835593
Grosfeld FJ, Lips CJ, Beemer FA, et al.: Distress in MEN 2 family members and partners prior to DNA test disclosure. Multiple endocrine neoplasia type 2. Am J Med Genet 91 (1): 1-7, 2000.10751081 20213133
Grosfeld FJ, Beemer FA, Lips CJ, et al.: Parents' responses to disclosure of genetic test results of their children. Am J Med Genet 94 (4): 316-23, 2000.11038446
Giarelli E: Bringing threat to the fore: participating in lifelong surveillance for genetic risk of cancer. Oncol Nurs Forum 30 (6): 945-55, 2003 Nov-Dec.14603352
Schultz PN: Providing information to patients with a rare cancer: using Internet discussion forums to address the needs of patients with medullary thyroid carcinoma. Clin J Oncol Nurs 6 (4): 219-22, 2002 Jul-Aug.12087618

## Latest Updates to This Summary (02/14/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about Multiple endocrine neoplasia type 2 (MEN2). It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Multiple Endocrine Neoplasia Type 2 (MEN2) are:

- Erica Blouch, MS, CGC (Massachusetts General Hospital Cancer Center)
- Kathleen A. Calzone, PhD, RN, AGN-BC, FAAN (National Cancer Institute)
- Suzanne C. O'Neill, PhD (Georgetown University)
- Nancy D. Perrier, MD, FACS (University of Texas, M.D. Anderson Cancer Center)
- John M. Quillin, PhD, MPH, MS (Virginia Commonwealth University)
- Charite Ricker, MS, CGC (University of Southern California)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ Multiple Endocrine Neoplasia Type 2 (MEN2). Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/men2-hp-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).